# Acupuncture (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of acupuncture in the treatment of people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

This cancer information summary provides an overview of the use of acupuncture as a treatment for individuals with cancer or cancer-related disorders. The summary includes a brief history of acupuncture practice, a review of laboratory and animal studies, the results of clinical observations and trials, and possible side effects of acupuncture therapy. Information presented in some sections of the summary can also be found in tables located at the end of those sections.

This summary contains the following key information:

- As part of traditional Chinese medicine, acupuncture has been practiced in China and other Asian countries for thousands of years.
- Acupuncture is defined as the application of stimulation such as needling, moxibustion, cupping, and acupressure on specific sites of the body known as acupuncture points.
- Acupuncture has been practiced in the United States for about 200 years. The U.S. Food and Drug Administration approved the acupuncture needle as a medical device in 1996.
- Acupuncture is used to treat a wide range of illnesses and ailments. Cancer patients use it for pain management, control of nausea and vomiting (N/V), fatigue, hot flashes, xerostomia, neuropathy, anxiety, depression, and sleep disturbance.
- Laboratory and animal studies exploring the mechanisms of acupuncture for cancer treatment have focused mainly on the role of acupuncture in the activation of neurohormonal pathways and immunomodulation.
- The aim of most acupuncture clinical observation and clinical trials in cancer patients has been to evaluate the effects of acupuncture on symptom management.
- The most convincing research data on the effects of acupuncture in cancer patients have emerged from studies of the management of chemotherapy-induced N/V.

Many of the medical and scientific terms used in this summary are hypertext linked (at first use in each section) to the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/), which is oriented toward nonexperts. When a linked term is clicked, a definition will appear in a separate window.

Reference citations in some PDQ cancer information summaries may include links to external websites that are operated by individuals or organizations for the purpose of marketing or advocating the use of specific treatments or products. These reference citations are included for informational purposes only. Their inclusion should not be viewed as an endorsement of the content of the websites, or of any treatment or product, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board or the National Cancer Institute.

## General Information

Acupuncture, a complementary therapy used in symptom management,[1-4] is used clinically to manage cancer-related symptoms, treat side effects induced by anticancer therapies, boost blood cell count, and enhance lymphocyte and natural killer (NK) cell activity. In cancer treatment, its primary use is symptom management; commonly treated symptoms are cancer pain,[4,5] chemotherapy-induced nausea and vomiting (N/V),[6,7] and other symptoms that affect a patient’s quality of life, including weight loss, anxiety, depression, insomnia, poor appetite, fatigue, xerostomia, hot flashes, chemotherapy-induced peripheral neuropathy, gastrointestinal symptoms (constipation and diarrhea), and postoperative ileus.[8-10] Acupuncture is acceptable and safe for children.[11,12] See Pediatric Population and Acupuncture for more information.

Cancer patients are receptive to receiving acupuncture for symptom control. A 2018 cross-sectional study of breast cancer survivors showed that an equal percentage of patients preferred acupuncture versus medication for pain management.[13] A similar study in 2020 showed that fear of analgesic side effects is significantly associated with preference for acupuncture.[14] On the other hand, the most common barriers to using acupuncture for these patients were lack of knowledge about acupuncture, concerns about lack of insurance coverage, cost, and difficulty finding qualified acupuncturists. For acupuncture to become part of the standard of care for cancer patients, further education about acupuncture, improved insurance coverage, and accessibility to qualified acupuncturists are needed.[15]

More than 40 states and the District of Columbia have laws regulating acupuncture practice. The National Certification Commission for Acupuncture and Oriental Medicine offers national certification examinations for practitioners of acupuncture and traditional Chinese medicine (TCM) (www.nccaom.org); most, but not all, states require this certification. More than 50 schools and colleges of acupuncture and Oriental medicine operate in the United States, many of which offer master’s-level programs and are accredited by or have been granted candidacy status by the Accreditation Commission for Acupuncture and Oriental Medicine (ACAOM). ACAOM standards for a master's-level degree require a 3-year program (approximately 2,000 hours of study) for acupuncture and a 4-year program for Oriental medicine, which includes acupuncture and herbal therapy (www.ACAOM.org). In recent years, some schools have begun to offer programs for Doctor of Acupuncture and Oriental Medicine with an additional 1,200 hours of clinical-based doctoral training. Some Western medical training, including the study of anatomy, physiology, and clean-needle technique, is included in the curriculums of these schools. Postgraduate training programs in medical acupuncture for physicians also exist. In the United States, training to be a licensed acupuncturist is regulated according to individual state law. Because the educational and licensing requirements for acupuncture practice vary from state to state, one should inquire from each state board of acupuncture (or other relevant board) for information (www.nccaom.org). Third-party reimbursements also vary from state to state. Some insurance companies cover acupuncture or limited acupuncture treatment. Federal payers such as Medicare and Medicaid do not generally reimburse for acupuncture treatment.

Acupuncture has been practiced in China and other Asian countries for more than 4,000 years.[16-18] In China, acupuncture is part of a TCM system of traditional medical knowledge and is practiced along with other treatment modalities such as herbal medicine, tui na (massage and acupressure), mind/body exercise (e.g., qigong and tai chi), and dietary therapy.[19,20] In the United States, several different acupuncture styles are practiced in addition to TCM. These include Japanese acupuncture (e.g., meridian therapy), English acupuncture (e.g., five-element or traditional acupuncture), French acupuncture (e.g., French energetic acupuncture), Korean acupuncture (e.g., constitutional acupuncture), and American medical acupuncture. Most of these styles are derived from ancient Chinese medical philosophy and practices. All are based on the view that the human body must be perceived and treated as a whole and as part of nature; health is the result of harmony among bodily functions and between the body and nature, and disease occurs when this harmony is disrupted. TCM therapeutic interventions, including acupuncture, are used to restore the state of harmony.

Acupuncture is closely associated with Chinese meridian theory. According to this theory, there are 12 primary meridians, or channels, and eight additional meridians, each following a particular directional course along the body. A vital energy known as qi flows through these meridians and participates in the homeostatic regulation of various bodily functions. Along the meridians are approximately 360 points that serve as both pathognomonic signs of disorder and as loci for acupuncture treatments.[18,21] When the normal flow of energy over a meridian is obstructed (e.g., as a result of tissue injury or a tumor), pain or other symptoms result. Chinese medicine proposes that the purpose of acupuncture therapy is to normalize energy flow, thereby relieving the symptoms by stimulating specific sites (acupuncture points) on the meridians.[22] In acupuncture treatment, stainless steel needles, usually ranging from 0.22 mm to 0.25 mm in diameter, are inserted into relevant acupuncture points to stimulate the affected meridians. A needling sensation known as de qi sensation occurs, in which the patient may feel heaviness, numbness, or tingling during an acupuncture treatment. Length and frequency of treatment vary according to the condition being treated. An acupuncture treatment course for cancer symptoms or treatment of side effects is often given as multiple sessions per week.[23] Needles are typically left in place for 15 to 30 minutes after insertion, and their effects may be augmented with manual or electrical stimulation and/or heat (e.g., moxibustion or heat lamps).

Classical techniques of acupuncture include the following:

- Needling.
- Moxibustion.
- Cupping.

Acupressure, using fingers or mechanical devices to apply pressure on acupuncture points is based on the same principles as acupuncture. Moxibustion is a method in which an herb (Artemisia vulgaris) is burned above the skin or on an acupuncture point for the purpose of warming it to alleviate symptoms. Cupping promotes blood circulation and stimulates acupuncture points by creating a vacuum or negative pressure on the surface of the skin.[22] During the past several decades, various new auxiliary devices have been developed. Acupuncture devices such as electroacupuncture (EA) machines and heat lamps are commonly used to enhance the effects of acupuncture.

In addition to classical acupuncture techniques, other techniques have been developed and are sometimes used in cancer management. These include trigger point acupuncture, laser acupuncture, acupuncture point injection, and techniques focusing on particular regions of the body such as:

- Auricular acupuncture.
- Scalp acupuncture.
- Face acupuncture.
- Hand acupuncture.
- Nose acupuncture.
- Foot acupuncture.
- Wrist-ankle acupuncture.

Of these, auricular acupuncture is the most commonly used.

In clinical practice, most acupuncturists in the United States use the traditional theories and principles of Chinese medicine. A 2017 survey of 472 licensed acupuncturists in the San Francisco Bay area reported that 77% were caring for patients with cancer, and 44% have training specific to the needs of patients with cancer.[24]

Although acupuncture has been practiced for millennia, it has come under rigorous scientific investigation only recently. In 1976, the U.S. Food and Drug Administration (FDA) classified acupuncture needles as investigational devices (class III) (www.fda.gov), resulting in a number of research studies on the effectiveness and safety of acupuncture.[25] In November 1994, the Office of Alternative Medicine (the predecessor of the National Center for Complementary and Integrative Health) at the National Institutes of Health (NIH) sponsored an NIH-FDA workshop on the status of acupuncture needle usage. Two years later, the FDA reclassified acupuncture needles as medical devices (class II) without, however, giving specific indications for their use.[26] In 1997, NIH held a Consensus Development Conference on acupuncture (https://consensus.nih.gov/1997/1997acupuncture107html.htm) to evaluate its safety and efficacy. The 12-member panel concluded that promising research results showing the efficacy of acupuncture in certain conditions have emerged and that further research is likely to uncover additional areas in which acupuncture intervention will be useful. The panel stated that “there is clear evidence that needle acupuncture treatment is effective for postoperative and chemotherapy N/V.” It also stated that there are “a number of other pain-related conditions for which acupuncture may be effective as an adjunct therapy, an acceptable alternative, or as part of a comprehensive treatment program,” and it agreed that further research is likely to uncover additional areas in which acupuncture intervention will be useful.[25]

These actions by the FDA and NIH have resulted in the establishment of several active programs of research into the mechanisms and efficacy of acupuncture, much of which is, or is potentially, relevant to cancer management. The most extensively investigated aspect of these mechanisms has been the effect of acupuncture on pain management. The NIH Consensus Panel concluded that “acupuncture can cause multiple biological responses,” local and distal, “mediated mainly by sensory neurons…within the central nervous system.” Acupuncture “may also activate the hypothalamus and the pituitary gland, resulting in a broad spectrum of systemic effects,” including “alterations in peptides, hormones and neurotransmitters and the regulation of blood flow.”[25] The effect of acupuncture on chronic inflammatory pain has been studied.[27,28] Evidence suggests that acupuncture operates through the autonomic nervous system to balance the sympathetic and parasympathetic systems and suggests that the anti-inflammatory effects of acupuncture are mediated by its electrophysiologic effects on neurotransmitters, cytokines, and neuropeptides.[1,28-37] Many studies provide evidence that opioid peptides are released during acupuncture and that acupuncture analgesia is mediated by the endogenous opioid system.[38,39]

Although the mechanism of acupuncture is not fully understood, it has been proposed that beneficial results are mediated by changes in neurohormones and cytokines. Animal research suggests that acupuncture achieves its anesthetic effect by stimulating nerves in the muscle, which then relay the signal to the spinal cord, midbrain, and hypothalamus-pituitary system, ultimately triggering release of neurotransmitters and hormones, such as endorphins and enkephalins.[40,41]

Laboratory and animal cancer studies have also explored the mechanisms of acupuncture through the activation and modulation of the immune system. Previous animal and human studies have suggested that acupuncture worked through immunomodulation, with significant changes in cytokines including interleukin (IL)-1, IL-6, IL-8, IL-10, and tumor necrosis factor-alpha (TNF-alpha).[42-46] These studies were limited by small sample size and occasional conflicting results. Acupuncture has been associated with significant changes in proinflammatory cytokines including IL-1-beta, IL-6, IL-17, and TNF-alpha.[42-47] In addition, studies showed that acupuncture needle manipulation stimulated surrounding connective tissues and sensory nerves [48] and affected adenosine-mediated peripheral sensory modulation.[49]

Acupuncture treatment points are located by using standard anatomic landmarks and comparative anatomy. EA is the most commonly used treatment intervention; a few studies have used moxibustion.[50] These studies show that acupuncture may boost animal immune function by enhancing NK cell and lymphocyte activity.[50-52] According to one animal study, acupuncture may be a useful adjuvant for suppressing chemotherapy-induced emesis.[53]

Although several studies published in China examined the effect of acupuncture on the human immune system,[8,35,38,54-57] most cancer-related human clinical studies of acupuncture evaluated its effect on patient quality of life. These investigations mainly focused on cancer symptoms or cancer treatment–related symptoms, predominantly cancer pain [10,29,58-62] and chemotherapy-induced N/V.[31,33,63-71] Studies have also evaluated the effect of acupuncture on radiation-induced xerostomia (dry mouth), proctitis, dysphonia, weight loss, cough, thoracodynia, hemoptysis, fever, esophageal obstruction, poor appetite, night sweats, hot flashes in women and men,[72] dizziness, fatigue, anxiety, and depression in cancer patients.[8-10,73-76] The evidence from most of these clinical studies is inconclusive, despite their positive results; either poor research design or incompletely described methodologic procedures limit their value.[77] There is controversy about the most appropriate control for acupuncture, which also limits the interpretability of the results of clinical trials.[78] The positive results of the studies on chemotherapy-induced N/V, which benefit from scientifically sound research designs, are the most convincing.

A 2018 retrospective analysis of prospectively collected data of 375 cancer survivors who received acupuncture treatments at the MD Anderson Cancer Center Integrative Medicine Center outpatient clinic showed that patients experienced short- and long-term improvement in multiple symptoms including hot flashes, fatigue, numbness, tingling, and nausea.[79]

### References

Wong R, Sagar CM, Sagar SM: Integration of Chinese medicine into supportive cancer care: a modern role for an ancient tradition. Cancer Treat Rev 27 (4): 235-46, 2001.11545543
Pan CX, Morrison RS, Ness J, et al.: Complementary and alternative medicine in the management of pain, dyspnea, and nausea and vomiting near the end of life. A systematic review. J Pain Symptom Manage 20 (5): 374-87, 2000.11068159
Norheim AJ, Fønnebø V: Attitudes to the contribution of placebo in acupuncture--a survey. Complement Ther Med 10 (4): 202-9, 2002.12594970
Sellick SM, Zaza C: Critical review of 5 nonpharmacologic strategies for managing cancer pain. Cancer Prev Control 2 (1): 7-14, 1998.9765761
Charlton JE: Cancer pain management. Cah Anesthesiol 41 (6): 621-4, 1993.8287304
Ezzo J, Vickers A, Richardson MA, et al.: Acupuncture-point stimulation for chemotherapy-induced nausea and vomiting. J Clin Oncol 23 (28): 7188-98, 2005.16192603
Ezzo JM, Richardson MA, Vickers A, et al.: Acupuncture-point stimulation for chemotherapy-induced nausea or vomiting. Cochrane Database Syst Rev (2): CD002285, 2006.16625560
Xia YQ, Zhang D, Yang CX, et al.: An approach to the effect on tumors of acupuncture in combination with radiotherapy or chemotherapy. J Tradit Chin Med 6 (1): 23-6, 1986.3016416
Johnstone PA, Polston GR, Niemtzow RC, et al.: Integration of acupuncture into the oncology clinic. Palliat Med 16 (3): 235-9, 2002.12047000
Niemtzow RC: Integration of complementary disciplines into the oncology clinic. Part I. Acupuncture. Curr Probl Cancer 24 (4): 184-93, 2000 Jul-Aug.11001324
Kemper KJ, Sarah R, Silver-Highfield E, et al.: On pins and needles? Pediatric pain patients' experience with acupuncture. Pediatrics 105 (4 Pt 2): 941-7, 2000.10742351
Chokshi SK, Ladas EJ, Taromina K, et al.: Predictors of acupuncture use among children and adolescents with cancer. Pediatr Blood Cancer 64 (7): , 2017.28176457
Bao T, Li SQ, Dearing JL, et al.: Acupuncture versus medication for pain management: a cross-sectional study of breast cancer survivors. Acupunct Med 36 (2): 80-87, 2018.29440043
Liou KT, Trevino KM, Meghani SH, et al.: Fear of analgesic side effects predicts preference for acupuncture: a cross-sectional study of cancer patients with pain in the USA. Support Care Cancer 29 (1): 427-435, 2021.32383073
Bao T, Li Q, DeRito JL, et al.: Barriers to Acupuncture Use Among Breast Cancer Survivors: A Cross-Sectional Analysis. Integr Cancer Ther 17 (3): 854-859, 2018.29338443
Gongwang L: Fundamentals of Acupuncture and Moxibustion. 2nd ed. China Press, 2006.
Cheng X: Chinese Acupuncture and Moxibustion. 3rd ed. Foreign Languages Press, 2018.
O'Connor J, Bensky D, eds.: Acupuncture: A Comprehensive Text. Eastland Press, 1981.
Lao L: Traditional Chinese medicine. In: Jonas WB, Levin JS, eds.: Essentials of Complementary and Alternative Medicine. Lippincott Williams & Wilkins, 1999, pp 216-233.
Ergil KV: Traditional medicine of China and East Asia. In: Micozzi M S: Fundamentals of Complementary, Alternative, and Integrative Medicine. 6th ed. Elsevier, 2019, pp 483-510.
Stux G: History of acupuncture. In: Stux G, Pomeranz B: Acupuncture: Textbook and Atlas. Springer-Verlag, 1987, pp 36-7.
Lao L: Acupuncture techniques and devices. J Altern Complement Med 2 (1): 23-5, 1996.9395637
Lu W, Rosenthal DS: Acupuncture for cancer pain and related symptoms. Curr Pain Headache Rep 17 (3): 321, 2013.23338773
Abrams D, McCulloch M, Cohen M, et al.: A Survey of Licensed Acupuncturists in the San Francisco Bay Area: Prevalence of Treating Oncology Patients. Integr Cancer Ther 17 (1): 92-98, 2018.28056563
NIH Consensus Conference. Acupuncture. JAMA 280 (17): 1518-24, 1998.9809733
Acupuncture needle. In: Office of the Federal Register: Electronic Code of Federal Regulations Title 21 [Database]. U.S. National Archives and Records Administration and U.S. Government Publishing Office, 2018, Sec. 880.5580. Available online (https://www.ecfr.gov/cgi-bin/text-idx?SID=858063f92bc85cc816cc94711fe31445&mc=true&node=se21.8.880_15580&rgn=div8). Last accessed May 26, 2022.
Lao L, Zhang G, Wei F, et al.: Electro-acupuncture attenuates behavioral hyperalgesia and selectively reduces spinal Fos protein expression in rats with persistent inflammation. J Pain 2 (2): 111-7, 2001.14622832
Zijlstra FJ, van den Berg-de Lange I, Huygen FJ, et al.: Anti-inflammatory actions of acupuncture. Mediators Inflamm 12 (2): 59-69, 2003.12775355
Dang W, Yang J: Clinical study on acupuncture treatment of stomach carcinoma pain. J Tradit Chin Med 18 (1): 31-8, 1998.10437260
Moyad MA, Hathaway S, Ni HS: Traditional Chinese medicine, acupuncture, and other alternative medicines for prostate cancer: an introduction and the need for more research. Semin Urol Oncol 17 (2): 103-10, 1999.10332924
Dundee JW, Ghaly RG, Fitzpatrick KT, et al.: Acupuncture prophylaxis of cancer chemotherapy-induced sickness. J R Soc Med 82 (5): 268-71, 1989.2666662
Hoskin PJ, Hanks GW: The management of symptoms in advanced cancer: experience in a hospital-based continuing care unit. J R Soc Med 81 (6): 341-4, 1988.2457110
Dundee JW, Ghaly RG, Fitzpatrick KT, et al.: Optimising antiemesis in cancer chemotherapy. Br Med J (Clin Res Ed) 294 (6565): 179, 1987.3109556
Harris PF, Remington PL, Trentham-Dietz A, et al.: Prevalence and treatment of menopausal symptoms among breast cancer survivors. J Pain Symptom Manage 23 (6): 501-9, 2002.12067774
Zhou RX, Huang FL, Jiang SR, et al.: The effect of acupuncture on the phagocytic activity of human leukocytes. J Tradit Chin Med 8 (2): 83-4, 1988.3412017
Petti F, Bangrazi A, Liguori A, et al.: Effects of acupuncture on immune response related to opioid-like peptides. J Tradit Chin Med 18 (1): 55-63, 1998.10437265
Johnstone PA, Bloom TL, Niemtzow RC, et al.: A prospective, randomized pilot trial of acupuncture of the kidney-bladder distinct meridian for lower urinary tract symptoms. J Urol 169 (3): 1037-9, 2003.12576840
He CJ, Gong KH, Xu QZ, et al.: Effects of microwave acupuncture on the immunological function of cancer patients. J Tradit Chin Med 7 (1): 9-11, 1987.3613646
Mayer DJ: Biological mechanisms of acupuncture. Prog Brain Res 122: 457-77, 2000.10737077
Han JS: Acupuncture: neuropeptide release produced by electrical stimulation of different frequencies. Trends Neurosci 26 (1): 17-22, 2003.12495858
Berman B: A 60-year-old woman considering acupuncture for knee pain. JAMA 297 (15): 1697-707, 2007.17440146
Joos S, Schott C, Zou H, et al.: Immunomodulatory effects of acupuncture in the treatment of allergic asthma: a randomized controlled study. J Altern Complement Med 6 (6): 519-25, 2000.11152056
Petti FB, Liguori A, Ippoliti F: Study on cytokines IL-2, IL-6, IL-10 in patients of chronic allergic rhinitis treated with acupuncture. J Tradit Chin Med 22 (2): 104-11, 2002.12125480
Jeong HJ, Kim BS, Oh JG, et al.: Regulatory effect of cytokine production in asthma patients by SOOJI CHIM (Koryo Hand Acupuncture Therapy). Immunopharmacol Immunotoxicol 24 (2): 265-74, 2002.12066852
Wu HG, Zhou LB, Pan YY, et al.: Study of the mechanisms of acupuncture and moxibustion treatment for ulcerative colitis rats in view of the gene expression of cytokines. World J Gastroenterol 5 (6): 515-517, 1999.11819501
Jeong HJ, Hong SH, Nam YC, et al.: The effect of acupuncture on proinflammatory cytokine production in patients with chronic headache: a preliminary report. Am J Chin Med 31 (6): 945-54, 2003.14992546
Arrieta Ó, Hernández-Pedro N, Fernández-González-Aragón MC, et al.: Retinoic acid reduces chemotherapy-induced neuropathy in an animal model and patients with lung cancer. Neurology 77 (10): 987-95, 2011.21865574
Langevin HM, Bouffard NA, Badger GJ, et al.: Subcutaneous tissue fibroblast cytoskeletal remodeling induced by acupuncture: evidence for a mechanotransduction-based mechanism. J Cell Physiol 207 (3): 767-74, 2006.16511830
Goldman N, Chen M, Fujita T, et al.: Adenosine A1 receptors mediate local anti-nociceptive effects of acupuncture. Nat Neurosci 13 (7): 883-8, 2010.20512135
Wu P, Cao Y, Wu J: Effects of moxa-cone moxibustion at Guanyuan on erythrocytic immunity and its regulative function in tumor-bearing mice. J Tradit Chin Med 21 (1): 68-71, 2001.11360545
Liu LJ, Guo CJ, Jiao XM: [Effect of acupuncture on immunologic function and histopathology of transplanted mammary cancer in mice] Zhongguo Zhong Xi Yi Jie He Za Zhi 15 (10): 615-7, 1995.8704430
Sato T, Yu Y, Guo SY, et al.: Acupuncture stimulation enhances splenic natural killer cell cytotoxicity in rats. Jpn J Physiol 46 (2): 131-6, 1996.8832330
Lao L, Zhang G, Wong RH, et al.: The effect of electroacupuncture as an adjunct on cyclophosphamide-induced emesis in ferrets. Pharmacol Biochem Behav 74 (3): 691-9, 2003.12543236
Wu B, Zhou RX, Zhou MS: [Effect of acupuncture on interleukin-2 level and NK cell immunoactivity of peripheral blood of malignant tumor patients] Zhongguo Zhong Xi Yi Jie He Za Zhi 14 (9): 537-9, 1994.7866002
Wu B, Zhou RX, Zhou MS: [Effect of acupuncture on immunomodulation in patients with malignant tumors] Zhongguo Zhong Xi Yi Jie He Za Zhi 16 (3): 139-41, 1996.9208533
Wei Z: Clinical observation on therapeutic effect of acupuncture at zusanli for leukopenia. J Tradit Chin Med 18 (2): 94-5, 1998.10437222
Ye F, Chen S, Liu W: Effects of electro-acupuncture on immune function after chemotherapy in 28 cases. J Tradit Chin Med 22 (1): 21-3, 2002.11977512
Li QS, Cao SH, Xie GM, et al.: Combined traditional Chinese medicine and Western medicine. Relieving effects of Chinese herbs, ear-acupuncture and epidural morphine on postoperative pain in liver cancer. Chin Med J (Engl) 107 (4): 289-94, 1994.8088198
Alimi D, Rubino C, Leandri EP, et al.: Analgesic effects of auricular acupuncture for cancer pain. J Pain Symptom Manage 19 (2): 81-2, 2000.10766574
He JP, Friedrich M, Ertan AK, et al.: Pain-relief and movement improvement by acupuncture after ablation and axillary lymphadenectomy in patients with mammary cancer. Clin Exp Obstet Gynecol 26 (2): 81-4, 1999.10459443
Filshie J, Redman D: Acupuncture and malignant pain problems. Eur J Surg Oncol 11 (4): 389-94, 1985.4065352
Wen HL: Cancer pain treated with acupuncture and electrical stimulation. Mod Med Asia 13 (2): 12-6, 1977.
Shen J, Wenger N, Glaspy J, et al.: Electroacupuncture for control of myeloablative chemotherapy-induced emesis: A randomized controlled trial. JAMA 284 (21): 2755-61, 2000.11105182 20558506
Dundee JW, Yang J, McMillan C: Non-invasive stimulation of the P6 (Neiguan) antiemetic acupuncture point in cancer chemotherapy. J R Soc Med 84 (4): 210-2, 1991.2027146
Dundee JW, Yang J: Prolongation of the antiemetic action of P6 acupuncture by acupressure in patients having cancer chemotherapy. J R Soc Med 83 (6): 360-2, 1990.2380964
Aglietti L, Roila F, Tonato M, et al.: A pilot study of metoclopramide, dexamethasone, diphenhydramine and acupuncture in women treated with cisplatin. Cancer Chemother Pharmacol 26 (3): 239-40, 1990.2357773
Dundee JW, McMillan CM: Clinical uses of P6 acupuncture antiemesis. Acupunct Electrother Res 15 (3-4): 211-5, 1990.1982043
Dundee JW, Ghaly RG, Fitzpatrick KT, et al.: Acupuncture to prevent cisplatin-associated vomiting. Lancet 1 (8541): 1083, 1987.2883410
Price H, Lewith G, Williams C: Acupressure as an antiemetic in cancer chemotherapy. Complementary Medical Research 5 (2): 93-4, 1991.
Stannard D: Pressure prevents nausea. Nurs Times 85 (4): 33-4, 1989 Jan 25-31.2928174
McMillan C, Dundee JW, Abram WP: Enhancement of the antiemetic action of ondansetron by transcutaneous electrical stimulation of the P6 antiemetic point, in patients having highly emetic cytotoxic drugs. Br J Cancer 64 (5): 971-2, 1991.1834156
Lee MS, Kim KH, Shin BC, et al.: Acupuncture for treating hot flushes in men with prostate cancer: a systematic review. Support Care Cancer 17 (7): 763-70, 2009.19224253
Porzio G, Trapasso T, Martelli S, et al.: Acupuncture in the treatment of menopause-related symptoms in women taking tamoxifen. Tumori 88 (2): 128-30, 2002 Mar-Apr.12088252
Zhang ZH: Effect of acupuncture on 44 cases of radiation rectitis following radiation therapy for carcinoma of the cervix uteri. J Tradit Chin Med 7 (2): 139-40, 1987.3448396
Yao W: Prof. Sheng Canruo's experience in acupuncture treatment of throat diseases with yan si xue. J Tradit Chin Med 20 (2): 122-5, 2000.11039000
Feng RZ: Relief of oesophageal carcinomatous obstruction by acupuncture. J Tradit Chin Med 4 (1): 3-4, 1984.6565880
Garcia MK, McQuade J, Haddad R, et al.: Systematic review of acupuncture in cancer care: a synthesis of the evidence. J Clin Oncol 31 (7): 952-60, 2013.23341529
Moffet HH: Sham acupuncture may be as efficacious as true acupuncture: a systematic review of clinical trials. J Altern Complement Med 15 (3): 213-6, 2009.19250001
Lopez G, Garcia MK, Liu W, et al.: Outpatient acupuncture effects on patient self-reported symptoms in oncology care: a retrospective analysis. J Cancer 9 (19): 3613-3619, 2018.30310519

## History

The generally accepted history of acupuncture/moxibustion (known as zhen jiu) is part of traditional Chinese medicine (TCM), an indigenous, coherent system of medicine that has been practiced in China for thousands of years. The history of acupuncture/moxibustion in China can be traced back archaeologically at least 4,000 years, when bian (stone needles) were in use. During the long history of recorded practice, acupuncture has been applied to many disorders. The earliest written medical text, the ancient classic Huang Di Nei Jing (Yellow Emperor's Inner Classic, second century BC), records nine types of needles and their therapeutic functions.

The dissemination of acupuncture and TCM to other regions dates back centuries, first to Korea and Japan and then to other Asian countries.[1] The use of acupuncture in Europe was documented in the middle of the 16th century.[2] The relatively brief history of acupuncture in the United States can be traced back about 200 years, when Dr. Franklin Bache published a report in the North American Medical and Surgical Journal on his use of acupuncture to treat lower back pain.[3] However, until the 1970s, when U.S.-Chinese diplomatic ties were resumed, the practice of acupuncture in this country was mainly limited to Chinatowns.[4]

For centuries, Chinese acupuncturists treated cancer symptomatically. Ancient literature and acupuncture textbooks classify cancer as a Zhi syndrome or blood stasis condition and document acupuncture treatment principles and methods.[5-7] Since the development of modern conventional medicine, acupuncture has primarily been used clinically as an adjunct to conventional cancer treatment.

### References

Lu GD, Needham J: A history of forensic medicine in China. Med Hist 32 (4): 357-400, 1988.3059100
Peacher WG: Adverse reactions, contraindications and complications of acupuncture and moxibustion. Am J Chin Med (Gard City N Y) 3 (1): 35-46, 1975.1091133
Bache F: Cases illustrative of the remedial effects of acupuncture. North American Medical and Surgical Journal 1: 311-21, 1826.
Ergil KV: Traditional medicine of China and East Asia. In: Micozzi M S: Fundamentals of Complementary, Alternative, and Integrative Medicine. 6th ed. Elsevier, 2019, pp 483-510.
Maciocia G: The Practice of Chinese Medicine: The Treatment of Diseases with Acupuncture and Chinese Herbs. 2nd ed. Churchill Livingstone, 2007.
Maciocia G: Obstetrics and Gynecology in Chinese Medicine. 2nd ed. Churchill Livingstone, 2011.
Kaptchuk T: The Web That Has No Weaver : Understanding Chinese Medicine. 2nd ed. McGraw-Hill Education, 2000.

## Laboratory/Animal/Preclinical Studies

At least seven animal studies investigating the effects of acupuncture in cancer or cancer-related conditions have been reported in the scientific literature.[1-5] Two of the studies were conducted in China, one of which was published in Chinese with an English abstract. One study was conducted in Japan, one in Sweden, and one in the United States. Four of the studies were ex vivo laboratory investigations using blood or tissue samples;[1-3,5] the remaining study was an animal behavioral study testing the effect of acupuncture on chemotherapy-induced nausea and vomiting.[4]

The four ex vivo studies suggested that acupuncture is useful in anticancer therapy either by actively stimulating immune activity or by preventing chemotherapy suppression of immune activity.[1-3,5]

In a study involving normal rats, electroacupuncture (EA) (1 Hz, 5–20 V, 1-millisecond pulse width, 2 hours) applied at the point Zu-Sanli (S36) for 2 hours daily on 3 consecutive days enhanced the cytotoxicity of splenic natural killer (NK) cells compared with a stimulation of a nonacupuncture control point in the abdominal muscle.[3]

Another study found that NK cell activity and T-lymphocyte transformation rate were increased in a mouse model of transplanted mammary cancer compared with a control (P < .05) after eight sessions of acupuncture and moxibustion.[2]

A study involving tumor-bearing mice (sarcoma S180) using moxibustion to warm the acupuncture point Guanyuan (CV4) once a day for 10 days found significantly increased production of erythrocytes, compared with a nontreatment control.[1]

The fourth ex vivo study used a rat model to investigate the effect of EA on nerve growth factor (NGF), which is associated with polycystic ovary syndrome (PCOS). Women with PCOS have an increased risk of endometrial cancer and other diseases. Repeated EA treatments (12 treatments administered over 30 days) in PCO rats significantly lowered the concentrations of NGF in the ovaries, compared with untreated PCO rats.[5]

A study of cyclophosphamide-induced emesis in a ferret behavioral model used acupuncture as an adjunct therapy in treating the emetic side effects of chemotherapy. EA at 100 Hz, 1.5 V, for 10 minutes in combination with subeffective doses of antiemetics such as ondansetron (0.04 mg/kg), droperidol (0.25 mg/kg), and metoclopramide (2.24 mg/kg) significantly reduced the total number of emetic episodes by 52%, 36%, and 73%, respectively (P < .01), in this ferret model.[4]

A rat model has been established by injecting AT-3.1 prostate cancer cells into the tibia of the adult male Copenhagen rat, which closely mimics prostate cancer-induced bone cancer pain.[6] The cancer-caused pain was treated with 10 Hz EA for 30 minutes a day at acupuncture point gallbladder 30 (GB30) from days 14 to 18 after cancer-cell injection. For sham control, EA needles were inserted into GB30 without stimulation. Thermal hyperalgesia, a decrease in paw withdrawal latency to a noxious thermal stimulus, and mechanical hyperalgesia, a decrease in paw withdrawal pressure threshold, were measured at baseline and 20 minutes after EA. EA significantly attenuated the hyperalgesia compared with sham control. Moreover, the EA inhibited up-regulation of preprodynorphin mRNA and dynorphin as well as interleukin-1beta (IL-1beta) and its mRNA compared with sham control. Intrathecal injection of antiserum against dynorphin A (1–17) and IL-1 receptor antagonist significantly inhibited the cancer-induced hyperalgesia. These data suggests that EA alleviates bone cancer pain at least in part by suppressing spinal dynorphin and IL-1beta expression.[7,8]

Another cutaneous cancer pain model has been established by injecting B16-BL6 melanoma cells into the plantar region of one hind paw of C57BL/6 mice. A single EA treatment showed significant analgesia on day 8 but not on day 20. EA treatments once every other day starting on day 8 showed analgesia at day 20, but EA starting on day 16 did not. The results indicate that EA exerts antihyperalgesic effects on early stage but not on late stage cutaneous cancer pain.[9] These animal studies support the clinical use of EA in the treatment of cancer pain.

The findings of these studies suggest that acupuncture may be effective in treating cancer-related symptoms and cancer treatment–related disorders and that acupuncture may be able to activate immune functions [1-3] and regulate the autonomic nervous system.[4,5] Only one study reported a decrease in tumor volume in animals treated with acupuncture compared with control animals; however, the scientific value of this report is limited because of insufficient information about the research methodology.[2]

### References

Wu P, Cao Y, Wu J: Effects of moxa-cone moxibustion at Guanyuan on erythrocytic immunity and its regulative function in tumor-bearing mice. J Tradit Chin Med 21 (1): 68-71, 2001.11360545
Liu LJ, Guo CJ, Jiao XM: [Effect of acupuncture on immunologic function and histopathology of transplanted mammary cancer in mice] Zhongguo Zhong Xi Yi Jie He Za Zhi 15 (10): 615-7, 1995.8704430
Sato T, Yu Y, Guo SY, et al.: Acupuncture stimulation enhances splenic natural killer cell cytotoxicity in rats. Jpn J Physiol 46 (2): 131-6, 1996.8832330
Lao L, Zhang G, Wong RH, et al.: The effect of electroacupuncture as an adjunct on cyclophosphamide-induced emesis in ferrets. Pharmacol Biochem Behav 74 (3): 691-9, 2003.12543236
Stener-Victorin E, Lundeberg T, Waldenström U, et al.: Effects of electro-acupuncture on nerve growth factor and ovarian morphology in rats with experimentally induced polycystic ovaries. Biol Reprod 63 (5): 1497-503, 2000.11058557
Zhang RX, Liu B, Wang L, et al.: Spinal glial activation in a new rat model of bone cancer pain produced by prostate cancer cell inoculation of the tibia. Pain 118 (1-2): 125-36, 2005.16154703
Zhang RX, Li A, Liu B, et al.: Electroacupuncture attenuates bone cancer pain and inhibits spinal interleukin-1 beta expression in a rat model. Anesth Analg 105 (5): 1482-8, table of contents, 2007.17959986
Zhang RX, Li A, Liu B, et al.: Electroacupuncture attenuates bone-cancer-induced hyperalgesia and inhibits spinal preprodynorphin expression in a rat model. Eur J Pain 12 (7): 870-8, 2008.18221900
Mao-Ying QL, Cui KM, Liu Q, et al.: Stage-dependent analgesia of electro-acupuncture in a mouse model of cutaneous cancer pain. Eur J Pain 10 (8): 689-94, 2006.16376128

## Human/Clinical Studies

### Effect of Acupuncture on Immune Function

There has been limited research, mostly performed in China, evaluating the effect of acupuncture on immune system function in cancer patients, suggesting that acupuncture improves immune function.[1-6]

### Effect of Acupuncture on Cancer Pain

Clinical studies and reviews of acupuncture as a treatment for cancer-related pain have been reported in the English language (see Table 1).[7-10] Two studies were randomized controlled trials (RCTs), with one study conducted in China and one in France.[7,8] Four studies were case series, with one each from England, France, Hong Kong, and the United States.[11-14]

One randomized trial compared classical Chinese acupuncture, acupuncture point injection with freeze-dried human transfer factor, and conventional analgesic treatment in patients with gastric cancer pain.[7] The investigators reported an equivalent analgesic effect among the three groups observed after 2 months of treatment; however, the conventionally treated group experienced significantly superior analgesia compared with both acupuncture treatment groups during the first 10 days of treatment. The researchers reported that the patients in both acupuncture treatment groups also experienced improved quality of life (QOL) and a decrease in the side effects of chemotherapy, in addition to analgesia.

A randomized, blinded, controlled trial (N = 90) reported that cancer pain intensity was significantly decreased (by 36%) in an auricular acupuncture treatment group, in comparison with control groups (by 2%, acupuncture at placebo points or auricular seeds placed at placebo points) after 2 months of treatment (P < .001).[8]

Although most of these studies were positive and demonstrated the effectiveness of acupuncture in cancer pain control, the findings have limited significance because of methodologic weaknesses such as small sample sizes, an absence of patient blinding to treatment in most cases, varying acupuncture treatment regimens, a lack of standard outcome measurements, and an absence of adequate randomization. A 2015 Cochrane systematic review of five RCTs reported benefits of acupuncture in reducing pancreatic cancer pain, pain from late-stage cancer, and chronic cancer-related neuropathic pain; the study found no difference between real and sham electroacupuncture (EA) for ovarian cancer pain.[15] However, because of small sample sizes and a high risk of bias, the authors concluded, “there is insufficient evidence to judge whether acupuncture is effective in treating cancer pain in adults.”[15]

In addition, a 2016 systematic review and meta-analysis of 1,639 participants with cancer-related pain in 20 RCTs with a high risk of bias showed that acupuncture alone was not superior to conventional drug therapy, although acupuncture plus drug therapy appeared to be superior to drug therapy alone.[16] However, this study was limited by the poor quality of combination therapy trials. Further investigations into the effects of acupuncture on cancer pain using rigorous scientific methodology are warranted.

Most acupuncture cancer pain clinical trials use conventional body acupuncture. A 2020 clinical trial studied the effect of wrist-ankle acupuncture in combination with auricular acupuncture to treat cancer pain and showed that the combination therapy is effective in reducing pain and analgesic medication usage.[17] The study is limited by small sample size, lack of placebo control, short follow-up, lack of description of treatment toxicities (e.g., infection or bleeding), and limited outcome measurement with using a numeric rating scale only.

Table 1. Clinical Studies of Acupuncture for Cancer-Related Pain^a^

Reference | Trial Design | Type of Pain | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control)^b^ | Treatment Duration | Concurrent Therapy Used (Yes/No/ Unknown)^c^ | Level of Evidence Score and Results^d^
[7] | RCT | Gastric cancer pain | 48; 16 (acupuncture), 16 (acupuncture point injection of freeze-dried human transfer factor); 16 (conventional analgesics) | 2 mo | No | 1iiC; in long-term treatment, equal or better analgesia than conventional drugs^e^
[8] | RCT | Cancer pain | 90; 28 (auricular acupuncture); 51 (acupuncture at placebo points in ear or auricular seeds fixed at placebo points with adhesive) | 2 mo | Yes, analgesics and co-analgesics, including tricyclic antidepressants and antiepileptics | 1sC; pain intensity decreased by 36% at 2 months^f^
[13] | Nonconsecutive case series | Cancer-related pain | 183; 183; none | Unknown | Yes, analgesics | 3iC; 95 (52%) “significantly helped”

RCT = randomized controlled trial; VAS = visual analog scale.

^a^For additional information and definition of terms, see the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/).

^b^Number of patients treated plus number of patient controls may not equal number of patients enrolled; number of patients enrolled equals number of patients initially recruited/considered by the researchers who conducted a study; number of patients treated equals number of enrolled patients who were given the treatment being studied AND for whom results were reported.

^c^Concurrent therapy for symptoms treated (not cancer).

^d^Strongest evidence reported that the treatment under study has activity or otherwise improves the well-being of cancer patients. For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

^e^P < .05, acupuncture treatment versus conventional analgesics.

^f^P < .0001, acupuncture versus placebo.

### Effect of Acupuncture on Cancer Treatment–Related Side Effects

#### Pain

##### Acupuncture for postsurgical pain

Five RCTs published in English have addressed the use of acupuncture for pain related to cancer treatment, mostly postsurgical pain (see Table 2). One RCT of 106 cancer patients who experienced postthoracotomy pain showed no statistical difference in the real acupuncture (RA) group compared with the sham acupuncture (SA) group in patients' pain scores measured by the Brief Pain Inventory at the 30-, 60-, and 90-day follow-up.[18] The efficacy of the unique intradermal needles used in this study was questionable.

One RCT (N = 93) compared acupuncture with massage therapy and usual care in controlling postoperative pain, nausea, vomiting, and depressive moods.[19] This study showed that postoperative acupuncture and massage in addition to usual care significantly improved pain control when compared with usual care alone.

Another study showed that in cancer patients with chronic pain or dysfunction as a result of neck dissection, four weekly acupuncture treatments significantly reduced pain and improved function compared with standard care alone.[20] Additionally, a study of 80 patients with breast cancer showed that when compared with usual care alone, acupuncture significantly improved postoperative pain and range of movement.[21] However, with no sham therapy group in these two studies, it is difficult to determine how much of the improvement is because of the placebo effect, and whether RA needles and professionally trained acupuncturists and massage therapists are required in the intervention.

Acupressure has been shown to be efficacious in reducing procedural pain. Two RCTs showed that acupressure at LI4 and HT7 significantly reduced patients’ pain and anxiety.[22 ,23]

Table 2. Summary of Randomized Controlled Trials of Acupuncture for Cancer Treatment–Related Pain Relief^a^

Reference | Type of Pain | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control)^b^ | Treatment Duration | Concurrent Therapy Used (Yes/No/ Unknown)^c^ | Results | Level of Evidence Score^d^
[18] | Postthoracotomy pain | 106; 52 (intradermal acupuncture); 54 (SA) | 1 mo | Unknown | No difference between the two groups | 1sC
[19] | Postoperative pain | 138; 93 (acupuncture and massage); 45 (usual care) | 2 d | Massage | The treatment group reported less pain^e^ | 1iiC
[20] | Pain and dysfunction in patients with cancer and a history of neck dissection | 58; 28; 30 (usual care) | Weekly for 4 wk | Unknown | Constant-Murley scores improved more in the acupuncture group (adjusted difference between groups = 11.2; 95% CI, 3.0–19.3)^f^ | 1iiC
[21] | Postoperative pain in breast cancer patients | 80; 48; 32 (usual care) | Postoperative d 3, 5, 7 and day of discharge | Unknown | The acupuncture group had improved postoperative pain^g^ and range of movement^h^ | 1iiC
[22] | BMAB pain | 77; 37; 40 (sham acupressure) | During the BMAB (11–12 min) | Yes, local analgesics | Acupressure reduced severe pain compared with sham acupressure | 1sC
[23] | BMAB | 90; 30 (acupressure at LI4), 30 (acupressure at HT7); 30 (sham acupressure) | 2 min after the start and end of biopsy | Yes, lidocaine | Reduced anxiety and pain in treatment group | 1sC

BMAB = Bone marrow aspiration and biopsy; CI = confidence interval; EA = electroacupuncture; SA = sham acupuncture.

^a^For additional information and definition of terms, see the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/).

^b^Number of patients treated plus number of patient controls may not equal number of patients enrolled; number of patients enrolled equals number of patients initially recruited/considered by the researchers who conducted a study; number of patients treated equals number of enrolled patients who were given the treatment being studied AND for whom results were reported.

^c^Concurrent therapy for symptoms treated (not cancer).

^d^Strongest evidence reported that the treatment under study has activity or otherwise improves the well-being of cancer patients. For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

^e^P = .038, acupuncture and massage versus usual care.

^f^P = .008, acupuncture versus usual care.

^g^P ≤ .01, acupuncture versus usual care.

^h^P < .001, acupuncture versus usual care.

##### Acupuncture for aromatase inhibitor-associated musculoskeletal symptoms

A 2012 meta-analysis of 29 trials with 17,922 patients found that RA is more beneficial than both SA and no acupuncture in the treatment of chronic pain, with a modest effect size of 0.23 (95% confidence interval [CI], 0.13–0.33).[24] However, none of the patients in these trials had pain due to cancer or cancer therapies. Recently published meta-analyses have examined outcomes from RCTs evaluating the effects of acupuncture on aromatase inhibitor-associated musculoskeletal symptoms (AIMSS) in breast cancer survivors with a history of stage I, II, or III nonmetastatic hormone receptor–positive breast cancer currently taking an aromatase inhibitor.

Three meta-analyses [25-27] identified five studies [28-32] that randomly assigned participants to receive SA or RA. Four of the studies were conducted in the United States and one was conducted in Australia. Two studies used EA [30,31] and three studies used manual acupuncture (MA).[28,29,32] Three of these studies were sham-controlled; one randomly assigned patients to receive either acupuncture followed by observation or vice versa, and one was a three-arm study where participants were randomly assigned to SA, EA, or wait-list control (WLC). All studies had relatively small sample sizes ranging from 19 to 67.

All studies included in the meta-analyses [25-27] classified changes in measures of joint pain and stiffness as primary outcomes. Participant symptom improvement was assessed by using self-reported measures for pain, and pain interference and stiffness at baseline and at specified intervals during and after the intervention. Results from these meta-analyses were not definitive and suggested further research needs to be conducted in this area.

Further extending the literature supporting the efficacy of acupuncture in treating AIMSS, an RCT was conducted using 226 participants (SWOG-S1200 [NCT01535066 (https://www.cancer.gov/clinicaltrials/NCT01535066)]) randomly assigned to three groups (MA, SA, and WLC) and found improvements in joint pain after treatment when compared with SA and WLC.[32] These findings are of uncertain clinical significance because the magnitude of difference in the primary outcome measure between groups (MA vs. SA) was less than the amount that was predetermined as being clinically meaningful by the researchers. However, these findings are consistent with results from existing observational studies showing the safety and feasibility of acupuncture in treating pain.

Table 3. Clinical Studies of Acupuncture for Aromatase Inhibitor-Induced Musculoskeletal Symptoms^a^

Reference | Trial Design | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control)^b^ | Treatment Duration^c^ | Concurrent Therapy Used (Yes/No/ Unknown)^d^ | Results | Level of Evidence Score^e^
[32] | RCT | 226; 110 (RA); 59 (SA), 57 (WLC) | Twice weekly for 6 wk, then once weekly for the following 6 wk for a total of 12 wk | Yes, non-opioid analgesics | Statistically significant reduction in joint pain at 6 weeks in the RA group compared with SA and WLC groups | 1sC
[28] | RCT | 38; 20 (RA); 18 (SA) | Twice weekly for 6 wk | Yes, non-opioid analgesics | RA significantly reduced AIMSS more than did SA | 1sC
[29] | RCT | 47; 23 (RA); 24 (SA/park device) | Weekly acupuncture or SA for 8 wk | Unknown | No significant difference between two groups
[30] | Pilot study | 29; 14 (real EA); 15 (sham EA) | Twice weekly for 6 wk | Yes, non-opioid analgesics | No significant differences in outcome measures between two groups | 1sC

AIMSS = aromatase inhibitor-induced musculoskeletal symptoms; EA = electroacupuncture; RA = real acupuncture; RCT = randomized controlled trial; SA = sham acupuncture; WLC = wait-list control.

^a^For additional information and definition of terms, see the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/).

^b^Number of patients treated plus number of patient controls may not equal number of patients enrolled; number of patients enrolled equals number of patients initially recruited/considered by the researchers who conducted a study; number of patients treated equals number of enrolled patients who were given the treatment being studied AND for whom results were reported.

^c^Represents primary outcome analysis time point; certain studies may have an extended intervention period.

^d^Concurrent therapy for symptoms treated (not cancer).

^e^Strongest evidence reported that the treatment under study has activity or otherwise improves the well-being of cancer patients. For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

##### Acupuncture for musculoskeletal pain in cancer survivors

In the 2021 Personalized Electroacupuncture versus Auricular Acupuncture Comparativeness Effectiveness (PEACE) trial, 360 cancer survivors with moderate to severe musculoskeletal pain (without evidence of disease) for at least 3 months were randomly assigned in a 2:2:1 ratio to receive electroacupuncture (EA), auricular acupuncture (AA), or usual care. Both EA and AA significantly reduced average pain severity on a 0 to 10–point pain scale (EA, 1.9; 95% CI, 1.4–2.4; AA, 1.6; 95% CI, 1.0–2.1) when compared with usual care. Because of ear pain, 10.5% of patients dropped out the AA group.[33]

#### Nausea and vomiting

##### Chemotherapy-induced nausea and vomiting

Of all the investigated effects of acupuncture on cancer-related or chemotherapy-related symptoms and disorders, the positive effect of acupuncture on chemotherapy-induced nausea and vomiting (N/V) is the most convincing, as demonstrated by the consistency of the results of a variety of clinical study types, including RCTs, nonrandomized trials, prospective consecutive case series, and retrospective studies (see Table 4). Consistent with the findings from clinical studies of acupuncture on N/V due to other causes (i.e., postoperative N/V and morning sickness), these studies showed acupuncture to be effective in the treatment of chemotherapy-induced N/V (CINV).

A 2013 systematic review of literature on acupuncture in cancer care screened 2,151 publications and identified 41 RCTs studying the effect of using acupuncture to treat eight cancer treatment–related symptoms (pain, nausea, hot flashes, fatigue, radiation-induced xerostomia, prolonged postoperative ileus, anxiety/mood disorders, and sleep disturbance). The review concluded that acupuncture is an appropriate adjunctive treatment for CINV, but additional studies are needed because most RCTs had unclear bias or a high risk of bias.[34]

In 2005, a comprehensive meta-analysis of 11 RCTs (N = 1,247) evaluating the effect of acupuncture-point stimulation in controlling CINV showed that acupuncture-point stimulation significantly reduced the proportion of acute vomiting (relative risk, 0.82; 95% CI, 0.69–0.99, P = .04),[35] although the meta-analysis did not show that acupuncture reduced the mean number of acute emetic episodes or acute or delayed nausea severity compared with control.

The trials in the meta-analysis were published between 1987 and 2003, and the sample sizes ranged from ten patients in the smallest trial [36] to 747 patients in the largest trial.[37] Among the ten trials that reported a chemotherapy regimen, all patients received moderate to high emetogenic chemotherapy. Eight of the trials used ondansetron, a 5-HT3-receptor antagonist, as the antiemetic regimen. The other three trials used methotrexate alone, methotrexate with prednisone, or methotrexate with dopaminergic antagonists as the antiemetic regimen.[35] None of the antiemetic regimens contained aprepitant because the trials all predated this drug.

A meta-analysis of acupuncture in N/V is the most comprehensive summary of clinical research on the role of acupuncture-point stimulation in controlling CINV. It found that acupuncture-point stimulation decreases the proportion of patients who experience acute chemotherapy-induced vomiting and concurred with the previous systemic review and meta-analysis.[38,39] It suggested that acupressure may relieve chemotherapy-induced nausea, even though the studies were limited by lack of an effective control arm to rule out the placebo effect. It also suggested differences among acupuncture-point stimulation modalities, with invasive-point stimulation to be more effective than noninvasive-point stimulation in reducing acute CINV.[35] It has since been cited multiple times by review articles and oncology practice guidelines.[40-42]

The National Institutes of Health Consensus Development Conference held in 1997 reviewed studies that evaluated the safety and efficacy of acupuncture in treating postoperative- and CINV.[43] Studies discussed at the conference reported significantly less N/V compared with the control group.[36,44-47] The panel stated that “there is clear evidence that needle acupuncture treatment is effective for postoperative and chemotherapy N/V.”[43]

The acupuncture point specificity is worth mentioning because most of the earlier acupuncture CINV trials used the PC6 acupuncture point and showed positive results. A well-designed, randomized, placebo-controlled trial published in 2014 showed that K1 acupoint acustimulation combined with antiemetics did not prevent cisplatin-induced or oxaliplatin-induced nausea in 103 liver cancer patients who underwent a transarterial chemoembolization (TACE) procedure.[48] A single-blind, randomized, controlled trial in 2017 showed that transcutaneous electrical stimulation at P6, LI4, and ST36 acupoints did not significantly alleviate CINV associated with TACE, when compared with placebo in patients with liver cancer.[49] EA at P6, LI4, and ST36 points did, however, reduce anorexia scores more than SA.

A 2016 RCT showed that among 48 breast cancer patients receiving chemotherapy, patients randomly assigned to the auricular acupressure group (ear seed placed on point zero, stomach, brainstem, shenmen, and cardia) had significantly less intense and less frequent N/V in acute and delayed phases compared with the control group that had no auricular acupressure.[50] This study is limited by its small sample size and lack of placebo control. However, it describes an additional noninvasive method to control CINV that may deserve further investigation.

Researchers have attempted to augment the impact of acupressure on the antiemetic effects using certain methods, but they were not found to be effective.[51]

A 2017 RCT that compared acupuncture with SA in 60 multiple myeloma patients undergoing bone marrow transplantation (BMT) showed that even though acupuncture did not significantly improve overall symptoms during and 15 days after BMT compared with SA, it was significantly more efficacious in reducing nausea, lack of appetite, and drowsiness at 15 days after BMT.[52] Patients who received SA were more likely to increase pain medication usage post-BMT.

A 2020 RCT examined the effect of real acupuncture versus sham acupuncture in reducing CINV among 134 patients with advanced cancer. Patients received treatment twice a day on the first day of chemotherapy and once a day for the next 4 days. No significant difference was found between the two groups.[53] Low CINV scores throughout the trial is a limitation of the study. The ceiling effect left little room for improvement in CINV scores.

##### Radiation-induced nausea and vomiting

Acupuncture has also been used to relieve radiation-induced N/V. In one randomized study, patients who were randomly assigned to receive either verum or SA experienced fewer episodes of N/V than did those who received standard care.[54]

Table 4. Randomized Controlled Trials of Acupuncture for Nausea and Vomiting from Chemotherapy or Radiation Therapy^a^

Reference | Condition or Cancer Type | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control)^b^ | Treatment Duration | Concurrent Therapy Used (Yes/No/Unknown)^c^ | Results^d^ | Level of Evidence Score^e^
Chemotherapy-Induced Nausea and Vomiting
[55] | Breast | 104; 37 (electroacupuncture), 33 (sham electrostimulation); 34 (no needling) | 5 d | Yes, prochlorperazine | Less N/V in EA group^f^ | 1sC
[53] | Various advanced cancers | 158; 68 (RA); 66 (SA) | 5 days | Yes, dexamethasone, ondansetron | No significant differences between groups | 1sC
[56] | Various cancers | 80; 41 (acupuncture); 39 (noninvasive placebo acupuncture) | Unknown | Yes, ondansetron | No significant differences between groups^g^ | 1sC
[57] | Ovarian | 142; 48 (acupuncture + vitamin B6 PC6 point injection), 48 (acupuncture); 46 (vitamin B6) | 3 wk | Yes, granisetron | Significantly less emesis compared with control | 1iiC
[36,44,45] | Testicular | 10; 10 (EA); 10 (sham EA) crossover study | Unknown | Yes, metoclopramide | Significantly less N/V compared with control^h^ | 1sC
[46] | Unknown | 100; 27 (surface electrodes), 11 (rubber electrodes), 24 (transcutaneous electrical stimulation); 14 (crossover study) | 5 d | Yes, metoclopramide, thiethylperazine, prochlorperazine, cyclizine | Significantly less N/V compared with control^i^ | 1iiC
[47] | Unknown | 16; 16 (ondansetron plus transcutaneous electrical stimulation); 16 (crossover treatment ondansetron only) | 5 d | Yes, ondansetron | Significantly less N/V compared with control^j^ | 1iiC
[48] | Liver or liver metastasis from other primary cancer | 103; 51 (acustimulation at K1 acupoint); 52 (electrostimulation at placebo point on heel) | 5 d | Yes, tropisetron | No significant differences between the groups | 1sC
[37] | Breast, hematologic neoplasms | 739; 233 (acupressure bands), 229 (transcutaneous electrical stimulation bands); 232 (no bands) | 5 d | Yes, 5-HT3 receptor antagonist, prochlorperazine, and/or others | Significantly less N/V in treatment groups compared with control^k^ | 1iiC
[58] | Unknown | 53; 38 (acupressure); 38 (crossover to acupressure at a sham point) | Unknown | Yes, antiemetics | Significantly less N/V compared with control^l^ | 1sC
[59] | Breast | 36; 17; 19 | 5 d | Yes, antiemetics | Significantly less N/V compared with control | 1iiC
[60] | Breast | 160; 53 (acupressure P6 - active); 53 (acupressure S13 - placebo), 54 (usual care) | 10 d | Yes, antiemetic | Significantly less delayed N/V for acupressure compared with control | 1sC
Post-Bone Marrow Transplantation
[52] | Multiple myeloma | 60; 29 (RA); 31 (SA) | 5 d for 20 min each treatment or until ANC dropped below 200/μl or platelet count dropped below 20,000/μl | Yes | Acupuncture group had less severe symptoms of nausea, appetite loss, and drowsiness than SA | 1sC
Radiation-Induced Nausea and Vomiting
[54] | Various cancers | 277; 109 (acupuncture), 106 (SA); 62 (standard care) | Six treatments | Yes, antiemetics | Significantly less emesis compared with control | 1sC

ANC = absolute neutrophil count; EA = electroacupuncture; N/V = nausea and vomiting; RA = real acupuncture; SA = sham acupuncture.

^a^For additional information and definition of terms, see the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/).

^b^Number of patients treated plus number of patient controls may not equal number of patients enrolled; number of patients enrolled equals number of patients initially considered by the researcher who conducted a study; number of patients treated equals number of enrolled patients who were given the treatment being studied AND for whom results were reported; historical control subjects are not included in number of patients enrolled.

^c^Concurrent therapy for symptoms treated (not cancer).

^d^These results indicate statistically significant differences unless stated otherwise.

^e^Strongest evidence reported that the treatment under study has activity or improves the well-being of cancer patients. For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

^f^P < .001, low-frequency EA at classical antiemetic acupuncture points daily versus minimal needling at control points with sham EA versus no adjunct needling.

^g^P < .05, acupuncture versus noninvasive placebo acupuncture.

^h^P < .001, EA versus sham EA.

^i^P < .001, surface electrodes versus rubber electrodes.

^j^P < .00059.

^k^P < .05, acupressure and acustimulation wrist bands versus no treatment.

^l^P < .02, acupressure versus acupressure at a sham point.

#### Vasomotor symptoms

Some studies have reported that acupuncture may be effective in reducing vasomotor symptoms among postmenopausal women with breast cancer and prostate cancer patients receiving androgen-deprivation therapy.[61-67]

Six RCTs have studied the role of acupuncture in reducing hot flashes in breast cancer survivors.

In 2007, one study reported results from a randomized, sham-controlled trial on the effect of acupuncture in treating breast cancer survivors who experienced three or more hot flashes per day.[61] The investigators reported that the mean number of hot flashes per day at week 6 changed from 8.7 to 6.2 in the RA arm, and from 10.0 to 7.6 in the SA arm. However, the difference between the RA group and the SA group was not statistically significant (P = .3). When patients in the SA group crossed over to receive RA, their hot flash frequency further reduced from 7.6 to 5.8. The reduction in hot flashes in all patients persisted during the 6 months of follow-up (RA arm, 6.1 per day; SA arm, 6.8 per day). On the basis of fewer hot flashes in both groups, the authors concluded that acupuncture reduced hot-flash frequency, although the difference between the RA and SA groups was not statistically significant.[61]

In 2009, one study reported another randomized SA-controlled trial on the effect of acupuncture in treating women with breast cancer who suffered from hot flashes after receiving tamoxifen for at least 3 months.[68] Fifty-nine women were randomly assigned to either 15 sessions (5 weeks biweekly followed by 5 weeks weekly) of RA or SA. The authors reported that at the end of the treatment period, the mean number of daytime hot flashes was reduced significantly from 9.5 to 4.7 (P = .001) in the RA group and from 12.3 to 11.7 (P = .382) in the SA group. At 12 weeks follow-up, further reduction was observed in the RA group (from 4.7 to 3.2) but not in the SA group (from 11.7 to 12.1). The difference between the RA group and SA group was statistically significant (P < .001). The authors concluded that acupuncture provided effective relief from hot flashes in women with breast cancer who suffered from hot flashes while taking tamoxifen.[68] The evidence generated from these two trials suggests that acupuncture effectively decreases hot-flash frequency, although it is not clear whether it is superior to SA.

Another clinical trial compared the effects of EA with hormonal therapy in breast cancer survivors with vasomotor symptoms; in 19 of 27 women who completed 12 weeks of EA treatment, the number of hot flashes was significantly reduced from 9.6 per day to 4.3 per day. The improvement persisted at the 12-month follow up.[69] In the hormonal treatment group, the median number of hot flashes dropped from 6.6 at baseline to 0 at week 12. Although hot flashes decreased less in the EA group than in the hormonal treatment group, health-related QOL improved at least to the same extent. It suggests that EA could be further evaluated as treatment for women with breast cancer and climacteric complaints, particularly since hormonal treatment is no longer recommended for breast cancer survivors.[69]

In 2010, another RCT compared the effect of acupuncture with venlafaxine in treating vasomotor symptoms in breast cancer patients suffering from more than 13 hot flashes per week.[63] Changes in hot flash frequency from baseline and at 3-, 6-, 9- and 12-month follow-up were used as the primary outcome. Fifty patients were randomly assigned to 12 weeks (biweekly for 4 weeks, followed by weekly for 8 weeks) of acupuncture versus daily venlafaxine (37.5 mg for 1 week, then 75 mg for 11 weeks). The investigators observed a significant reduction in hot flash frequency and severity in both groups. In addition, 2 weeks after treatments were stopped, patients randomly assigned to venlafaxine reported increased hot-flash frequency, whereas the acupuncture group remained at a low level of hot flashes. There was no significant difference between the acupuncture arm and the venlafaxine arm. There were 18 reported adverse events (i.e., nausea, dizziness, headache) in the venlafaxine arm and none in the acupuncture arm. The authors concluded that acupuncture appears to be as effective as venlafaxine and is a safe and durable treatment option for breast cancer patients experiencing vasomotor symptoms.[63]

In 2013, a study reported the results of a three-arm RCT (N = 94) comparing RA (N = 31) with SA (N = 29) and usual care alone (N = 34) in reducing hot flashes in breast cancer survivors. In the acupuncture group, 16 (52%) patients experienced a significant reduction in hot flashes compared with 7 (24%) in the SA group (P < .05). There was also a statistically positive effect on sleep when RA was compared with SA. Importantly, the researchers measured the plasma estradiol level and determined that there was not a correlation between symptoms improvement and an increase in estradiol level.[70]

In 2014, a study reported the results of a two-arm RCT (N = 47) on the effect of acupuncture in reducing AIMSS and hot flashes as one of the secondary end points. When compared with baseline, acupuncture significantly improved hot-flash severity, frequency, and function. SA significantly improved the Hot Flash Related Daily Interference Scale only. However, there was no significant difference between the two groups.[71]

These trials once again confirmed that acupuncture is safe. They showed that acupuncture reduced hot flashes significantly when compared with baseline, although the benefit of RA versus SA was not clear.

A 2015 systematic review of acupuncture to control hot flashes in cancer patients showed that in all eight studies included in the review, acupuncture resulted in significant improvement from the baseline, and three studies showed RA was significantly better than SA in different aspects of hot flashes. However, none of the studies were rated with a low risk of bias.[72] A 2016 meta-analysis of 12 RCTs published before April 2015 on the efficacy of acupuncture or EA on breast cancer survivors suffering from hot flashes failed to show a favorable effect of acupuncture on reducing the frequency of hot flashes when compared with control groups such as SA, hormone therapy, antidepressants, or relaxation intervention.[73] The authors explained that this finding may be due to heterogeneity of the studies, small sample size of the studies, and the underlying methodological issues with some studies. Another 2016 systematic review of 12 RCTs (including eight in the aforementioned meta-analysis) found that all RCTs showed the effect of acupuncture when compared with no acupuncture. However, only two of the six RCTs comparing RA with SA showed significant benefit of acupuncture over placebo. The other studies showed that acupuncture was no better than hormone therapy, venlafaxine, or relaxation controls.[74] Consequently, there is insufficient evidence supporting or refuting using acupuncture to treat hot flashes. Further studies are needed.

A study published in 2015 that used EA in the treatment of hot flashes randomly assigned 120 breast cancer survivors who were suffering from hot flashes at least twice daily to one of four of the following arms: EA, SA, gabapentin (GP), and placebo pills (PP) for 8 weeks.[75] Unlike other acupuncture efficacy trials, however, the primary end point was the change in hot flash composite scores (HFCS) between SA and PP at week 8, with secondary end points including posttreatment comparisons of all groups at different time points and examination of treatment durability at week 24. It showed that SA produced significantly greater reductions in HFCS than did PP by week 8, indicating a greater placebo effect with SA. Although all arms experienced HFCS reductions, SA produced significantly better results than did both GP and PP interventions (EA, −7.4; SA, −5.9; GP, −5.2; and PP, −3.4), compared with baseline scores. In addition, SA had a smaller nocebo effect than PP, as evidenced by the significantly higher percentage of reported adverse events for PP (20.0%) compared with SA (3.1%). Another intriguing finding is the more-durable effect in HFCS reductions produced at week 24 (16 weeks posttreatment) with both EA and SA treatments (EA, −8.5; SA, −6.1) than with GP (GP, −2.8), suggesting that both types of acupuncture may elicit underlying physiologic changes not induced by pharmacologic intervention. On the other hand, the effect size of EA compared with SA was small at week 8 (Cohen’s d, 0.21) but got bigger at week 24 (Cohen’s d, 0.31), suggesting EA may produce additional or longer-lasting physiological effects than would SA.[75]

A 2016 pragmatic RCT (N = 190) that compared individualized acupuncture plus enhanced self-care (as described in an information booklet provided to all patients) with enhanced self-care alone showed that the combination therapy is superior to self-care alone in reducing hot flash scores at the end of treatment, at the 3-month follow-up visit, and at the 6-month follow-up visit.[76][Level of evidence: 1iiC] In addition, this highly impactful study also showed that acupuncture significantly improved patients’ QOL without any serious adverse effects.[76] It used the standard traditional Chinese medicine acupuncture approach, which first identified menopausal syndromes according to Maciocia’s recommendations and consequently chose individualized acupoints in addition to three common acupoints: SP6, LI11, and CV4.[76] This study provides solid evidence to support the use of acupuncture to reduce hot flashes and improve breast cancer survivors’ QOL. However, further research is needed to understand the mechanisms of how acupuncture may have reduced hot flashes.

Table 5. Summary of Randomized Controlled Trials of Acupuncture for Hot Flashes in Breast Cancer Patients^a^

Reference | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control)^b^ | Treatment Duration | Concurrent Therapy Used (Yes/No/Unknown)^c^ | Results | Level of Evidence Score^d^
[76] | 190; 85 (RA and enhanced self-care); 105 (enhanced self-care) | 12 wk | Yes, HT | Significantly fewer hot flashes than control. | 1iiC
[61] | 72; 42 (RA); 30 (SA) | 4 wk | Yes, SSRIs | RA was associated with 0.8 fewer hot flashes per day than SA at 6 wk. No statistically significant differences. | 1sC
[68] | 59; 30 (RA); 29 (SA) | 10 wk | No | Hot flash frequency and Kupperman index were reduced during the treatment period and during the 12-week follow-up. | 1sC
[69] | 45; 27 (EA); 18 (HT) | 24 mo | Yes, estrogen/progesterone | The median number of hot flashes/24 hr decreased from baseline to 12 wk of treatment in both groups^e^. | 1iiC
[63] | 50; 25 (RA); 25 (venlafaxine) | 12 wk | Yes, venlafaxine | Acupuncture was as effective as venlafaxine. | 1iiC
[70] | 94; 31 (RA); 29 (SA), 34 (usual care) | Weekly for 5 wk | Yes, clonidine, venlafaxine, mirtazapine, HT | 16 patients (52%) in the RA group had significant reduction of hot flashes compared with 7 patients (24%) in the SA group^f^. | 1sC
[75] | 120; 30 (EA), 28 (GA); , 32 (SA), 30 (placebo pills) | 8 wk | Yes, HT, SSRIs, SNRIs | EA and SA had significant reduction of hot flashes compared with placebo. | 1sC
[71] | 47; 23 (RA); 24 (SA) | Weekly for 8 wk | Yes, venlafaxine | Compared with baseline, RA significantly improved hot flash severity, frequency, and HFRDI; SA significantly improved HFRDI only. No significant difference between the two groups. | 1sC

EA = electroacupuncture; GA = gabapentin; HFRDI = hot flash–related daily interference scale; hr = hour(s); HT = hormone therapy; RA = real acupuncture; SA = sham acupuncture; SNRI = serotonin-norepinephrine reuptake inhibitor; SSRI = selective serotonin reuptake inhibitor.

^a^For additional information and definition of terms, see the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/).

^b^Number of patients treated plus number of patient controls may not equal number of patients enrolled; number of patients enrolled equals number of patients initially recruited/considered by the researchers who conducted a study; number of patients treated equals number of enrolled patients who were given the treatment being studied AND for whom results were reported.

^c^Concurrent therapy for symptoms treated (not cancer).

^d^For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

^e^P < .001, acupuncture versus hormone therapy.

^f^P < .05, acupuncture versus placebo versus usual care.

#### Cancer-related fatigue

Fatigue is a common symptom in patients with cancer and a frequent side effect of chemotherapy and radiation therapy. No effective treatment exists. Several RCTs have been conducted to study the effect of acupuncture in reducing cancer-related fatigue (see Table 6).

One pilot RCT enrolled 47 cancer patients experiencing moderate to severe cancer fatigue and randomly assigned them to one of three groups: acupuncture (N = 15), acupressure (N = 16), or SA (N = 16). Patients in the acupuncture group received six 20-minute acupuncture sessions during a 2-week period; patients in the two acupressure groups were taught to massage RA versus SA points daily for 2 weeks.[77] The Multidimensional Fatigue Inventory was used to assess their responses at baseline, and at week 2 and week 4 follow-up. At the end of week 2, general fatigue, physical fatigue, activity, and motivation significantly improved in the acupuncture and acupressure groups when compared with baseline. At the end of week 2, fatigue level improved by 36% in the acupuncture group, 19% in the acupressure group and 0.6% in the control group. Moreover, the improvement was maintained at the week 4 follow-up. Acupuncture was found to be a more effective method than acupressure or SA. The authors concluded that acupuncture showed a greater potential for managing cancer-related fatigue; further testing in a multicenter RCT with larger sample sizes is warranted.[77] A small randomized study of 28 patients with non-small cell lung cancer reported decreased fatigue and improved QOL with RA compared with SA. The effect was sustained during the 6-week observation period.[78]

A follow-up RCT (N = 302) by the same group of investigators was published in 2013; among the 246 evaluable patients, acupuncture significantly reduced cancer-related fatigue, anxiety, and depression, and improved QOL when compared with usual care.[79] The investigators again randomly assigned 197 patients to receive 4 weeks of therapist-delivered acupuncture (N = 65), self-acupuncture (N = 67), or no acupuncture (N = 65) to determine the effect of maintenance therapy for cancer-related fatigue, and found that there was no difference between the therapist-delivered acupuncture and self-acupuncture; there was a nonsignificant trend in improving fatigue when comparing the acupuncture groups with the no-acupuncture group (P = .07).[80]

Conversely, two RCTs showed no significant difference between RA and SA in reducing cancer-related fatigue (see Table 6).[81,82] One study reported in 2009 that among the 27 patients receiving daily radiation therapy, both weekly RA and SA treatment improved fatigue, fatigue distress, QOL, and depression from baseline to 10 weeks, but the differences between the two interventions were not significant.[81] In 2013, another study reported the results of an RCT of RA compared with SA involving 101 patients with postchemotherapy chronic fatigue. Among the 74 evaluable patients, both groups had a one-point decrease in Brief Fatigue Inventory score; however, there was no statistically significant difference between the groups. This study was limited by the large number of patients (27) lost to follow up.[82] An Australian pilot study (N = 30) showed that when compared with controls, acupuncture significantly reduced fatigue and improved well-being in patients with breast cancer patients who had posttreatment fatigue.[83]

These results showed that acupuncture significantly improved fatigue when compared with usual care alone, although whether it is significantly better than SA will warrant further study.

A 2016 pilot RCT of 78 cancer survivors with cancer-related fatigue showed that infrared laser acupuncture point stimulation was safe in cancer patients. Patients who received infrared laser acupuncture point stimulation on ST36, CV4, and CV6 acupoints 3 times per week for 4 weeks had less fatigue than those who received sham treatment at the end of treatment (3.01 vs. 4.40; P = .002), and the effect lasted to week 8.[84] In addition, a 2016 large RCT of 288 breast cancer survivors with persistent fatigue (NCT01281904 (https://www.cancer.gov/clinicaltrials/NCT01281904)) showed that two types of acupressure (relaxing and stimulating) significantly reduced cancer fatigue.[85] Post hoc analysis revealed that acupressure was associated with reduced anxiety, pain, and depressive symptoms when compare with usual care.[86]

The AIMSS study that was published in 2014 examined the effect of acupuncture on cancer-related fatigue as a secondary end point.[87] When compared with WLCs, EA significantly improved fatigue, anxiety, and depression. SA did not improve fatigue or anxiety but did improve depression.[87] The investigators did not compare EA with SA directly because the study was not powered to detect a difference between EA and SA, especially for secondary end points.

Table 6. Summary of Studies of Acupuncture for Cancer Fatigue^a^

Reference | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control)^b^ | Treatment Duration | Concurrent Therapy Used (Yes/No/Unknown)^c^ | Results | | Level of Evidence Score^d^
[77] | 47; 15 (acupuncture: six 20-minute sessions during 2 wk), 16 (acupressure: massage acupoints daily); 16 (SA: massage no acupoints daily) | 2 wk | Unknown | Both acupuncture and acupressure significantly reduced cancer fatigue. Acupuncture was a more effective method than acupressure or sham acupressure. | | 1sC
[79] | 302; 227 (acupuncture: once per wk for 6 wk); 75 (usual care) | 6 wk | No | Acupuncture significantly improved fatigue (-3.11; 95% CI, -3.97 to -2.25)^e^. | | 1iiC
[88] | 13; 6 (education integrated with acupuncture); 7 (usual care) | Improve self-care for 4 wk; acupuncture for 8 wk | No | A 2.38-point decline in fatigue as measured by the BFI when compared with usual care control (90% CI, 0.586–5.014)^f^. | | 1iiC
[81] | 27; 16 (RA); 11 (SA) | Once to twice per wk during the 6-wk course of radiation therapy | No | Both groups had improvement in fatigue, fatigue distress, QOL, and depression from baseline to wk 10, but no statistically significant intergroup difference. | | 1sC
[82] | 101; 34 (RA); 40 (SA) | Weekly for 6 wk | Unknown | 74 (34 RA; 40 SA control) patients were evaluable. No significant difference of BFI scores between groups. | | 1sC
[87] | 67; 22 (EA), 22 (SA: Steinberg needles); 23 (WLC) | 10 treatments during 8 wk | Unknown | Compared with the WLC, EA improved fatigue^g^, anxiety^h^, and depression^i^ during the 12-wk intervention and follow-up period. In contrast, SA did not reduce fatigue or anxiety symptoms but did improve depression compared with the WLC^j^. | | 1sC
[83] | 30; 10 (acupuncture), 10 (SA); 10 (WLC) | Six treatments in 8 wk | Unknown | Acupuncture significantly reduced fatigue in 2 wk and improved well-being in 6 wk. | | 1sC
[84] | 78; 39 (laser acupuncture point stimulation); 39 (sham laser acupuncture point stimulation) | Once every other day (3x/wk for 4 wk) for a total of 12 sessions | Unknown | Less fatigue in the treatment group. | | 1sC

BFI = Brief Fatigue Inventory; CI = confidence interval; EA = electroacupuncture; QOL = quality of life; RA = real acupuncture; SA = sham acupuncture; WLC = wait-list control.

^a^For additional information and definition of terms, see the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/) for additional information and definition of terms.

^b^Number of patients treated plus number of patient controls may not equal number of patients enrolled; number of patients enrolled equals number of patients initially recruited/considered by the researchers who conducted a study; number of patients treated equals number of enrolled patients who were given the treatment being studied AND for whom results were reported.

^c^Concurrent therapy for symptoms treated (not cancer).

^d^Strongest evidence reported that the treatment under study has activity or otherwise improves the well-being of cancer patients. For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

^e^P < .001, acupuncture versus usual care.

^f^P < .10, education and acupuncture versus usual care.

^g^P = .0095, acupuncture versus WLC group in the improvement of fatigue.

^h^P = .044, acupuncture versus WLC group in the improvement of anxiety.

^i^P = .015, acupuncture versus WLC group in the improvement of depression.

^j^P = .0088, SA versus WLC group in the improvement of fatigue, anxiety, and depression.

#### Xerostomia

A number of clinical studies have investigated the effect of acupuncture for the treatment and prevention of xerostomia in nasopharyngeal carcinoma and head and neck cancer patients.

Acupuncture was associated with a decrease in the onset of symptoms and an increased saliva flow in two randomized studies that compared acupuncture with standard care for preventing xerostomia in patients undergoing radiation therapy.[89,90]

Compared with standard care, acupuncture significantly improved xerostomia symptoms in patients who experienced the condition following radiation therapy.[20,91]

In 2012, one group published two studies on the effect of acupuncture for preventing xerostomia. The first was a pilot study (N = 23); when compared with SA, RA significantly reduced xerostomia questionnaire scores from week 3 through the 1-month follow-up after radiation therapy. However, they did not find significant difference in salivary flow rates between the groups.[92] The other study (N = 86) showed that when compared with standard care acupuncture significantly lowered the xerostomia questionnaire scores in weeks 3 to 6 during 6 weeks of chemoradiation therapy. In addition, greater saliva flow was noticed in the acupuncture group than in the control group at weeks 7 and 11 and at the 6-month follow-up.[89]

Another study examined long-term effects of acupuncture on xerostomia.[93] Patients who received RA were followed for 6 months and up to 3 years. Compared with baseline, significant differences in salivary flow rates were seen in patients 6 months after acupuncture treatment. At 3 years, patients who received additional acupuncture exhibited greater saliva flow rates than patients who did not continue acupuncture treatment.

One phase III clinical trial with sites in the United States and China randomly assigned 399 patients (339 patients were included in the final analysis) to receive true acupuncture (TA), SA, or standard care control (SCC), with a primary endpoint of xerostomia questionnaire score reduction at 1 year.[94] Acupuncture was given three times per week during a 6- to 7-week course of radiation therapy at the two sites. Treatment adherence was high at more than 95%. Looking at the sample as a whole, xerostomia score reduction in the TA group was greater than in the SCC group (P = .001; effect size, −0.44); however, only marginally different from the SA group (P = .06; effect size, −0.26). Of note, a post hoc analysis revealed differences in response to acupuncture between sites, suggesting a potential influence of setting (inpatient vs. outpatient) and cultural differences on outcomes. An additional phase III clinical trial is ongoing to evaluate the effect of acupuncture for the treatment (NCT01141231 (https://www.cancer.gov/clinicaltrials/NCT01141231)) of xerostomia in head and neck cancer patients. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/about-cancer/treatment/clinical-trials).

The findings from these studies are summarized in Table 7 below.

Table 7. Summary of Randomized Controlled Trials of Acupuncture for Radiation-Induced Xerostomia^a^

Reference | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control)^b^ | | | Treatment Duration | Concurrent Therapy Used (Yes/No/ Unknown)^c^ | Results | Level of Evidence Score^d^
[94] | 399; 132 (RA), 134 (SA); 133 (SCC) | | | 6–7 wk | Unknown | Decreased xerostomia | 1sC
[89] | 86; 40; 46 | | | 7 wk | No | Symptoms improved and salivary flow increased
[91] | 145; 75 (oral care followed by acupuncture), 70 (acupuncture followed by oral care); none | | | 8 wk | No | Symptoms improved | 1iiC
[92] | 23; 11 (acupuncture); 12 (SA) | | | Unknown | No | Symptoms improved only | 1sC

RA = real acupuncture; SA = sham acupuncture; SCC = standard care control.

^a^For additional information and definition of terms, see the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/) for additional information and definition of terms.

^b^Number of patients treated plus number of patient controls may not equal number of patients enrolled; number of patients enrolled equals number of patients initially considered by the researcher who conducted a study; number of patients treated equals number of enrolled patients who were given the treatment being studied AND for whom results were reported.

^c^Concurrent therapy for symptoms treated (not cancer).

^d^Strongest evidence reported that the treatment under study has anticancer activity or otherwise improves the well-being of cancer patients. For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

#### Chemotherapy-induced peripheral neuropathy

Chemotherapy-induced peripheral neuropathy (CIPN) is a common and dose-limiting side effect of neurotoxic chemotherapy. CIPN can manifest as a variety of symptoms, including pain, paresthesia, sensory loss, and muscle weakness, which can lead to poor dexterity and gait disturbance. Because there is limited effective treatment available, the debilitating symptoms of CIPN can cause delay, dose-reduction, or discontinuation of life-saving treatment. Long-term CIPN often significantly impacts patients’ functional abilities and QOL. Depending on the agent used and the length of treatment, CIPN can persist long after chemotherapy completion in up to 55% of patients.[95] The current standard of care is limited to symptom management with narcotics, antidepressants, and antileptics. However, studies suggest that analgesic regimens typically produce only modest pain relief and are commonly associated with side effects such as dizziness, sedation, dry mouth, and constipation. Acupuncture has emerged as a promising treatment modality to reduce CIPN symptoms.

##### Acupuncture to treat persistent CIPN from taxane or platinum-based chemotherapy

Several studies have investigated the use of acupuncture to alleviate CIPN. Preliminary evidence from two small non–placebo-controlled studies (N = 5 [96] and N = 6 [97]) has shown that manual acupuncture can improve CIPN symptoms.

A three-arm RCT (N = 90) examined the use of auricular acupuncture for the treatment of chronic neuropathic pain in cancer patients after receiving cancer treatment. The study found a significant reduction in pain at 2 months in patients who were treated with acupuncture compared with patients who received the sham treatment.[8]

A multicenter observational study of 168 cancer patients who received taxanes or other neuropathy-inducing agents (i.e., bortezomib) compared acupuncture with acupuncture mind-body or control. The study found improvement in CIPN and related symptoms.[98]

In more recent studies, several RCTs found further promising effects of acupuncture in treating CIPN.

- A three-arm RCT (N = 75) of solid tumor patients with moderate to severe CIPN that compared RA to SA and usual care showed that RA reduced pain significantly more than usual care and at a greater degree than SA at the end of 8 weeks of treatment, and that pain reduction persisted at week 12 follow-up.[99] The analysis of QOL end points showed that both RA and SA significantly improved QOL measured by the FACT/GoG-Ntx, Hospital Anxiety and Depression Scale, and Insomnia Severity Index, compared with usual care, but no difference between RA and SA was found.[100]
- A randomized sham-controlled trial (N = 84) of colorectal cancer patients undergoing oxaliplatin-based chemotherapy that is currently in progress seeks to find if acupuncture can improve Functional Assessment of Cancer Therapy/Gynecologic Oncology Group-Neurotoxicity (FACT/GOG-NTX) scores as the primary outcome, and numerical rating scale (NRS) and vibration and light touch sense test scores as secondary outcomes (NCT03582423 (https://www.cancer.gov/clinicaltrials/NCT03582423)).[101]
- A pilot study (N = 33) of cancer patients with CIPN treated with 10 sessions of acupuncture found statistical differences in groups in physical (P = .03) and function (P = .04) domains as assessed by the European Organization for Research and Treatment Quality of Life Questionnaire (EORTC QLQ-C30) and improved neuropathy sensory symptoms as assessed by the National Cancer Institute Common Terminology Criteria for Adverse Events scale (NCT02309164 (https://www.cancer.gov/clinicaltrials/NCT02309164)).[102]
- A small pilot study (N = 10) of breast cancer patients with taxane-induced CIPN found that 12 sessions of acupuncture over 4 weeks significantly reduced CIPN pain as assessed by the Neuropathic Pain Symptom Inventory (NPSI) and improved sensory outcome as assessed by the Nerve Conduction Study.[103]

##### CIPN from bortezomib or thalidomide

Studies evaluating the effects of acupuncture on bortezomib and/or thalidomide-induced peripheral neuropathy have also shown promising results. Two studies of patients with multiple myeloma (N = 27 [104] and N = 19, EA [105]) concluded that acupuncture was safe and effective in treating CIPN after 10 weeks and 9 weeks of treatment, respectively.

##### Prevention of CIPN

In a phase IIA trial of acupuncture to prevent progression of CIPN severity from weekly paclitaxel in breast cancer patients, acupuncture prevented progression of CIPN severity in 26 of 27 patients, yielding a significantly lower progression rate compared with historical controls.[106]

In a sham-controlled trial (N = 63) of 12 weekly true or sham EA for the prevention of CIPN in breast cancer patients receiving taxane, there were no differences in pain or neuropathy between groups at week 12. At week 16, patients receiving real EA were found to have worse pain (higher BPI-SF score) compared with sham.[107] Further studies need to be conducted to evaluate the role of acupuncture in CIPN prevention.

##### Acupuncture for CIPN review

A systematic review and meta-analysis of seven databases through August 2019 examined 386 cancer patients from six randomized controlled trials of high quality, based on the modified Jadad scale.[108] The meta-analysis showed that acupuncture led to significant improvements in pain scores (-1.21; 95% confidence interval [CI], -1.61 to -0.82, P < .00001) and nervous system symptoms based on FACT-NTX questionnaire scores (-2.02; 95% CI, -2.21 to -1.84, P < .00001). The review concluded that acupuncture can effectively relieve CIPN pain and functional limitation. Another systematic review included 203 participants from three clinical trials.[109] Two studies found acupuncture to be effective in alleviating CIPN pain and improved QOL, and the third found no benefit. The review found that study quality was variable and included a moderate overall risk of bias. The review concluded that the evidence is insufficient to recommend acupuncture for the treatment or prevention of CIPN.

##### Conclusion on the use of acupuncture to treat CIPN

Emerging clinical trials comparing acupuncture with no acupuncture or SA showed promising efficacy for the use of acupuncture to reduce CIPN symptoms. Additional research needs to be done on exploring the mechanism of acupuncture to reduce CIPN symptoms and identify the sensitive population that may benefit most from acupuncture.

Table 8. Clinical Studies of Acupuncture for CIPN Treatment

Reference | Trial Design | Intervention | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control) | Measures | Results | Level of Evidence Score^a^
[99] | RCT | EA/SA/usual care | 75; 27 (RA), 24 (SA); 24 (usual care) | NRS | Significant improvement in NRS-rated pain compared with sham and usual care control | 1iiC
[8] | RCT | Ear needle at real points/ear needle at placebo points/seeds at placebo points | 90; 29 (acupuncture), 30 (acupuncture at placebo points); 31 (assigned seeds at placebo points) | VAS pain | VAS Pain reduction: 21 (acupuncture)/3 (placebo)/-1 (placebo); Limitations: not specific to CIPN; small sample size; treatment was once per month | 1sC
[110] | RCT | MA + vitamin B12/vitamin B12 | 98; 49 (acupuncture and methylcobalamin); 49 (methylcobalamin only) | VAS pain, FACT/GOG-NTX, NCS | MA + vitamin B12 significantly better than vitamin B12 alone | 1iiC
[111] | RCT | EA/EA + hydroelectric baths/daily high dose vitamin B1 and B6/placebo | 60; 14 (EA), 14 (hydroelectric baths), 15 (vitamin B1 and B6); 17 (placebo) | NRS | No significant difference among 4 arms; Limitations: low CIPN symptoms at baseline; small sample size | 1iiC
[112] | RCT | EA | 40; 20 (acupuncture); 20 (usual care) | PNQ sensory score, FACT-NTX, BPI-SF | Significant improvement compared with control | 1iiC
[98] | Observational | MA | 168; 69 (acupuncture), 67 (acupuncture and mind body therapy); 32 | FACT-Tax | Improvement in CIPN and related symptoms | 2C
[104] | Single arm | MA | 27; 27; none | FACT/GOG-NTX, NPS | Significant improvement compared with baseline | 2C
[105] | Single arm | EA | 19; 19; none | FACT/GOG-NTX | Significant improvement compared with baseline | 2C
[103] | Single arm | MA | 10; 10; none | NPSI, NCS, 4 wk | Significant improvement compared with baseline | 2C
[102] | Single arm | MA | 33; 15; 14 | VAS, EORTC QLQ-C30, NCI CTCAE | Significant improvement compared with baseline | 1iiC
[106] | Single arm | MA | 27; 27; none | Progression to grade 3 CIPN, FACT/GOG-NTX | Acupuncture prevented progression to grade 3 CIPN | 2C
[113] | Case series | Acupuncture/usual care | 47; 21; 26 | CIPN symptoms and NCS | 76% improved symptoms and NCS in acupuncture vs. 15% in control | 3iC
[96] | Case series | TCM acupuncture | 5; 5; none | VAS | CIPN symptoms improved | 3iC
[97] | Case series | Acupuncture/usual care | 11; 6; 5 | NCS | Improvement in NCS: 5/6 (acupuncture), 1/5 (control) | 3iC

BPI-SF = Brief Pain Inventory-Short Form; CIPN = chemotherapy-induced peripheral neuropathy; CTCAE = Common Terminology Criteria for Adverse Events; EA = electroacupuncture; EORTC QLQ-C30 = European Organization for Research and Treatment of Cancer Quality of Life Questionnaire; FACT/GOG-NTX = Functional Assessment of Cancer Therapy/Gynecologic Oncology Group-Neurotoxicity; FACT-NTX = Functional Assessment of Cancer Therapy-Neurotoxicity subscale; MA = manual acupuncture; NCS = nerve conduction studies; NPS = Neuropathy Pain Scale; NPSI = Neuropathic Pain Symptom Inventory; NRS = numerical rating scale; PNQ = Patient Neurotoxicity Questionnaire; RCT = randomized controlled trial; SA = sham acupuncture; TCM = traditional Chinese medicine; VAS = visual analog scale.

^a^For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

#### Lymphedema

Treatment-induced lymphedema may be a lifelong concern for some breast cancer survivors. There have been a number of case reports, retrospective chart reviews, and pilot studies demonstrating that acupuncture was safe and potentially effective in reducing swelling and improving symptoms in patients with upper- and lower-extremity edema.[114-117] A 2016 qualitative study of 23 breast and head and neck cancer patients with lymphedema who completed acupuncture and moxibustion treatments showed that patients viewed acupuncture and moxibustion as a valuable whole-person approach that helped them improve their energy and decrease pain.[118]

A 2013 single-arm clinical trial (N = 37) evaluated the safety and potential efficacy of acupuncture in treating patients with breast cancer–related lymphedema (BCRL).[117] In this trial, the investigators enrolled 37 breast cancer survivors with moderate to severe unilateral chronic BCRL; the survivors received eight sessions of standard acupuncture treatment given twice per week for 4 weeks. Four patients were not able to be evaluated because of early withdrawal. Acupuncture was deemed to be safe; no serious adverse events were reported after 255 acupuncture treatment sessions. Twelve of the 33 evaluable patients reported at least one incidence of mild bruising or minor pain/tingling in the arm, shoulder, or acupuncture site; no infections were reported, although the standard acupuncture treatment protocol involved inserting four acupuncture needles in the limb with lymphedema. This pilot study, although not an RCT, suggested a trend toward efficacy with a mean reduction in arm circumference of 0.90 cm in patients who received acupuncture treatment; eleven patients (33%) experienced at least a 30% reduction in arm circumference. Two patients did not use any additional lymphedema treatment during the trial. Most patients (28 of the remaining 31 patients) reported making no changes in their standard regimens to treat lymphedema during treatment. The authors concluded that acupuncture for BCRL is safe and may be effective. The same research group is conducting an RCT to further determine the efficacy of acupuncture in reducing BCRL symptoms (NCT01706081 (https://www.cancer.gov/clinicaltrials/NCT01706081)). However, in 2014, a pilot RCT of 17 women that compared acupuncture with usual care showed that 12 acupuncture treatments on the nonlymphedematous limb during 8 weeks did not change extracellular fluid or any patient-reported lymphedema outcomes.[119] The authors concluded that acupuncture may stabilize symptoms; however, further study is needed.

A 2016 RCT of 30 patients showed that warm acupuncture (acupuncture and moxibustion) improved BCRL in 51% of patients compared with 26% of patients treated with oral diosmin in the control group.[120] No adverse reaction was reported in the acupuncture and moxibustion group. The acupuncture and moxibustion group also had significant improvement in shoulder joint range of movement and QOL compared with the control group.

A RCT of acupuncture versus usual care WLC studying 82 BCRL patients did not show a significant difference in arm circumference or bioimpedance.[121]

#### Ileus

Four RCTs have studied the effect of acupuncture in reducing the duration of postoperative ileus and have generated conflicting results. In 2010, one study reported the results of an RCT studying the effect of EA compared with usual care and found that EA did not significantly prevent prolonged postoperative ileus.[122]

In 2012, another study reported the results of a phase II RCT that compared RA with SA (N = 90) for reducing postcolectomy ileus. No significant differences were reported between RA and SA in reducing postcolectomy ileus as measured by the time that the patient first tolerated solid food and the time that the patient first passed flatus or a bowel movement.[123]

In 2013, a third study reported the results of a three-arm RCT (N = 165) that compared EA with SA and no acupuncture in reducing duration of postoperative ileus after laparoscopic surgery for colorectal cancer. EA significantly shortened the time to defecation and the hospital stay compared with SA and no acupuncture.[124]

A 2017 systematic review and meta-analysis of 10 RCTs involving 776 cancer patients showed that acupuncture was associated with earlier recovery of bowel function (shorter time to first flatus and defecation) compared with the control (no acupuncture, or SA or other types of active treatments).[125] However, the data quality was deemed low because of the high risk of bias stemming from small sample sizes and methodological limitations.

A 2023 multicenter, sham-controlled RCT conducted in China compared EA with SA in patients who underwent laparoscopic resection for colorectal cancer (N = 249). The study reported that the median time to first defecation (primary endpoint) was significantly shorter in the EA group compared with the SA group (P = .003).[126] Prolonged postoperative ileus occurred in 10% of the EA group versus 20% in the SA group (P = .03). EA after laparoscopic colon cancer surgery was safe and effective in reducing postoperative ileus.

#### Anxiety

An RCT compared preoperative acupuncture, intraoperative acupuncture, and the combination of both with conventional care for alleviating anxiety in patients undergoing surgery.[127][Level of evidence: 1iiC] The study included 141 patients, treated in four groups. Preoperative acupuncture alleviated anxiety in the preoperative waiting area. The combination of preoperative and intraoperative acupuncture was most effective in improving postoperative QOL. Because of the lack of a sham control to assess the placebo effect, future studies using such a control are needed to determine the usefulness of this intervention.

An RCT showed that acupressure at LI4 and HT7 reduced pain and anxiety levels in patients undergoing bone marrow biopsy.[23]

Several studies have assessed improved anxiety as a secondary endpoint. An RCT that published in 2013 examined cancer-related fatigue in 246 patients. Patients reported that acupuncture significantly reduced fatigue, anxiety, and depression, and improved QOL when compared with usual care.[79] A study that published in 2014 evaluated the effects of acupuncture treatment on joint pain related to aromatase inhibitors. When acupuncture was compared with WLCs, EA significantly improved fatigue, anxiety, and depression. SA did not improve fatigue or anxiety but improved depression.[87] The investigators did not directly compare EA with SA because the study was not powered to detect a difference, especially for secondary end points.

A post hoc analysis of a larger study showed that acupressure was associated with reduced anxiety, pain, and depressive symptoms when compared with usual care.[86]

#### Sleep

Several RCTs have studied the effect of acupuncture in improving depression and sleep quality in cancer patients. In 2011, one study (N = 80) reported that acupuncture significantly improved depression and sleep quality when compared with fluoxetine. Patients receiving acupuncture reported significantly greater reductions in scores on the Self-rating Depression Scale, Hamilton Depression Rating Scale, and Pittsburgh Sleep Quality Index.[128]

A 2019 RCT of cancer survivors reported that even though both cognitive behavioral therapy for insomnia (CBT-I) and acupuncture produced a clinically significant reduction in insomnia severity, CBT-I is superior to acupuncture. Subgroup analyses showed that acupuncture was more effective than CBT-I in pain reduction, and CBT-I was more effective for improving insomnia in highly educated White males with no pain at baseline.[129] A secondary analysis of this trial evaluated the effect of acupuncture versus CBT-I on pain in cancer survivors with both insomnia and pain. Among the 70 cancer survivors, acupuncture (n = 35) reduced pain more significantly than CBT-I (n = 35) at week 8 (acupuncture, -1.4; 95% CI, -2.0 to -0.8; CBT-I, -0.4; 95% CI, -1.0 to 0.2). At 20-week follow-up, both groups showed significant pain reduction without intergroup difference.[130]

The effect of acupuncture on sleep has been studied as one of the secondary endpoints in an AIMSS study published in 2014.[87] Compared with wait-list controls, EA participants had a nonsignificant improvement in sleep disturbance (P = .058).

#### Other treatment-related side effects

Many studies have reported on the effects of acupuncture on cancer or other cancer treatment–related symptoms, including weight loss, cough, hemoptysis, fever, anxiety, depression, proctitis, dysphonia, esophageal obstruction, cancer-related cognitive impairment,[131-133] opioid-induced constipation,[134] and hiccups.[11,62,135-140] These studies were from China,[135,137-139] Japan,[62] Turkey,[134] Sweden, and the United States.[11,28,136,140] The findings from these studies are summarized in Table 9 below.

Table 9. Clinical Studies of Acupuncture for Other Cancer-Related Symptoms or Cancer Treatment–Related Side Effects^a^

Reference | Trial Design | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control)^b^ | | Treatment Duration | Concurrent Therapy Used(Yes/No/ Unknown)^c^ | Results | Level of Evidence Score^d^
Cognitive Impairment
[131] | RCT | 80; 40; 40 | | 5x/wk for two 4-wk courses | Unknown | Treatment group had significantly higher scores on FACT-COG, AVLT3, and CDT compared with baseline | 1iiC
[132] | RCT | 93; 46; 47 | | 2x/wk for 8-wk course | No | No difference in primary end point: Montreal cognitive assessment, treatment group had significantly better reverse digit span test compared with control (one of the secondary endpoints) | 1iiC
[133] | RCT | 99; 52 (acupuncture), 47 (cognitive behavior therapy; none | | 10 treatments for 8-wk course | No | Both groups had significant improvement compared with baseline; no between-group differences
Lymphedema and Related Symptoms
[120] | RCT | 30; 15 ( warm acupuncture at 6 acupoints); 15 (control group received 900 mg diosmin tablets) | | Acupuncture, 30 min on alternate days for 30 d; diosmin 3x/day for 30 d | Unknown | Significant reduction in upper arm lymphedema compared with diosmin | 1iiC
[121] | RCT | 82; 40 (RA); 42 (WLC) | | 2x/wk for 6 wk | Yes, massage, compression garments, exercise, or wraps | No significant difference between groups for arm circumference difference or bioimpedance difference | 1iiC
[114] | Nonconsecutive case series | 24; 24 (acupuncture and moxibustion); none | | 5x/wk during hospitalization and 2x/wk at outpatient clinic | Unknown | Edema prevented or markedly reduced | 3iiiC
[141] | Nonconsecutive case series | 35; 30 (acupuncture and moxibustion); none | | 2 wk with 4- and 12-wk follow-up | Unknown | Symptoms improved | 3iiiC
Ileus
[122] | RCT | 85; 44; 41 | Postoperative d 1 up to 6 d | | No | EA did not significantly prevent prolonged postoperative ileus
[123] | RCT | 90;46 (RA), 44 (SA); none | 3 d postoperative | | Unknown | No significant differences were reported | 1sC
[124] | RCT | 165; 55 (EA), 55 (SA); 55 | 4 d postoperative | | Unknown | EA significantly shortened the time to defecation and hospital stay compared with SA and no acupuncture
[126] | RCT | 249; 125 (EA), 124 (SA); none | 4 d postoperative | | Unknown | Prolonged postoperative ileus occurred in 10% of the EA group compared with 20% in the SA group | 1sC
Opioid-Induced Constipation
[134] | RCT | 200; 100; 100 | 8 min treatment, 1x/d for 4 wk | | Yes | Acupressure group had a decrease in constipation | 1iiC
Anxiety
[127] | RCT | 144; 36 (preoperative acupuncture), 35 (intraoperative acupuncture), 36 (combined techniques); 34 | 30 min | | Unknown | Preoperative acupuncture alleviated anxiety in the preoperative waiting area | 1iiC
[23] | RCT | 90; 30 (acupressure at LI4), 30 (acupressure at HT7); 30 (sham acupressure) | 2 min after the start and end of biopsy | | Yes, lidocaine | Reduced anxiety and pain in treatment group | 1sC
[79] | RCT | 302; 227 (acupuncture: once a wk for 6 wk); 75 (usual care) | 6 wk | | No | Acupuncture significantly reduced fatigue, anxiety, and depression, and improved QOL when compared with usual care^e^ | 1iiC
[87] | RCT | 249; 67; 22 (EA), 22 (SA: Steinberg needles); 23 (WLC) | 10 treatments during 8 wk | | Unknown | When acupuncture was compared with WLCs, EA significantly improved fatigue, anxiety, and depression; SA did not improve fatigue or anxiety but improved depression | 1sC
Sleep Disturbances
[87] | RCT | 67; 22 (EA); 22 (SA: Steinberg needles); 23 (WLC) | 10 treatments during 8 wk | | Unknown | As a secondary endpoint, EA participants had a nonsignificant improvement in sleep disturbance | 1sC
[128] | RCT | 80; 40; 40 | 30 d | | Unknown | Acupuncture significantly improved depression and sleep quality compared with fluoxetine | 1sC
[129] | RCT | 160; 80; 80 | 8 wk | | Yes | Both CBT-I and acupuncture produced a clinically significant reduction in insomnia severity, with CBT-I superior to acupuncture | 1iiC
[130] | RCT | 70; 35; 35 | 8 wk | | Unknown | A secondary analysis reported acupuncture reduced pain more significantly than CBT-I at week 8 in patients with both insomnia and pain | 1iiC
Fatigue
[77] | RCT | 47; 15 (acupuncture), 16 (acupressure); 16 (SA) | | 4 wk | No | Improved fatigue levels | 1sC
Radiation Proctitis
[137] | Nonconsecutive case series | 44; 44; none | | Unknown | No | Radiation proctitis resolved in 73% of patients: no blood or mucus for 15 days | 3iiiC
Hiccups
[140] | Retrospective case series | 16; 16; none | | 1–7 d | Unknown | Symptom relief | 3iiiC
Multiple Symptoms
[62] | Nonconsecutive case series, surveyed retrospectively | 79; 79 (traditional Chinese acupuncture, auricular acupuncture, percutaneous nerve stimulation, Korean hand acupuncture, or Japanese scalp acupuncture); none | | Unknown | Yes, standard medical therapies | 60% showed at least 30% improvement | 3iiiC

AVLT = auditory-verbal learning test; CBT-I = cognitive behavioral therapy for insomnia; CDT = clock-drawing test; EA = electroacupuncture; FACT-COG = functional assessment of cancer treatment cognition test; RA = real acupuncture; RCT = randomized controlled trial; SA = sham acupuncture; WLC = wait-list control.

^a^For additional information and definition of terms, see the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/) for additional information and definition of terms.

^b^Number of patients treated plus number of patient controls may not equal number of patients enrolled; number of patients enrolled equals number of patients initially considered by the researcher who conducted a study; number of patients treated equals number of enrolled patients who were given the treatment being studied AND for whom results were reported.

^c^Concurrent therapy for symptoms treated (not cancer).

^d^Strongest evidence reported that the treatment under study has anticancer activity or otherwise improves the well-being of cancer patients. For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

^e^P < .001, acupuncture versus usual care.

In an RCT,[135] 76 patients with various types of cancer, including 38 with esophageal cancer, 24 with gastric cancer, and 14 with lung cancer, were randomly assigned to two groups (N = 38 per group). The treatment group received acupuncture in combination with radiation therapy or chemotherapy, and the control group was treated with radiation therapy or chemotherapy alone. The data showed that the patients in the acupuncture group gained significantly more body weight than patients in the control group (P < .001). In patients with lung cancer, the acupuncture group also showed greater improvement than the controls in the symptoms of cough, thoracodynia, hemoptysis, and fever; in patients with esophageal cancer, the acupuncture group showed greater improvement in the symptoms of chest pain, mucus vomiting, and difficulty in swallowing. In addition, the acupuncture group suffered fewer side effects (e.g., poor appetite, N/V, dizziness, or fatigue) from radiation therapy or chemotherapy than the control group. However, no statistical analysis was performed on these data.

A retrospective study involved patients at an oncology clinic who were offered acupuncture treatment for potential palliation of symptoms.[136] Among 89 patients treated with acupuncture, 79 responded to a telephone questionnaire survey. The data indicated that the major reasons for referral included pain (53%), xerostomia (32%), hot flashes (6%), and nausea/loss of appetite (6%). Sixty percent of the patients showed at least 30% improvement in their symptoms, and about one-third had no change in the severity of symptoms. Patients were not questioned about acupuncture-treatment expectations.

### Pediatric Population and Acupuncture

Few studies have examined the effects of acupuncture on pediatric patients with cancer. In a survey study of 80 patients, the acceptance rate for acupuncture was 82% in pediatric, adolescent, and young adult patients undergoing hematopoietic stem cell transplant.[142] A 2018 RCT of 165 pediatric patients who received chemotherapy with high-emetogenic potential showed that acupressure bands at the PC6 point were safe but did not improve CINV when compared with placebo wrist bands.[143] An RCT of acupressure to reduce treatment-related symptoms in children with cancer and recipients of hematopoietic stem cell transplantation was initiated in October 2017. The study's protocol outline has been published.[144] No outcome data have been made available to date.

Adverse effects of acupuncture in children appear to be rare and limited to the same effects that are observed in adults.[145-147]. One study showed that there was no increased incidence of adverse events in children with thrombocytopenia or neutropenia.[147]

Table 10. Clinical Studies of Acupuncture in Pediatric Oncology^a^

Reference | Trial Design | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control)^b^ | Treatment Duration | Concurrent Therapy Used (Yes/No/ Unknown)^c^ | Results | Level of Evidence Score^d^
[143] | RCT | 165; 83 (real acupressure bands); 82 (sham bands) | Up to 7 d after chemotherapy | Yes, antiemetics | No significant differences noted between study groups | 1sC

RCT = randomized controlled trial.

^a^For additional information and definition of terms, see the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/).

^b^Number of patients treated plus number of patient controls may not equal number of patients enrolled; number of patients enrolled equals number of patients initially recruited/considered by the researchers who conducted a study; number of patients treated equals number of enrolled patients who were given the treatment being studied AND for whom results were reported.

^c^Concurrent therapy for symptoms treated (not cancer).

^d^Strongest evidence reported that the treatment under study has activity or otherwise improves the well-being of cancer patients. For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Zhou RX, Huang FL, Jiang SR, et al.: The effect of acupuncture on the phagocytic activity of human leukocytes. J Tradit Chin Med 8 (2): 83-4, 1988.3412017
He CJ, Gong KH, Xu QZ, et al.: Effects of microwave acupuncture on the immunological function of cancer patients. J Tradit Chin Med 7 (1): 9-11, 1987.3613646
Wu B, Zhou RX, Zhou MS: [Effect of acupuncture on interleukin-2 level and NK cell immunoactivity of peripheral blood of malignant tumor patients] Zhongguo Zhong Xi Yi Jie He Za Zhi 14 (9): 537-9, 1994.7866002
Wu B, Zhou RX, Zhou MS: [Effect of acupuncture on immunomodulation in patients with malignant tumors] Zhongguo Zhong Xi Yi Jie He Za Zhi 16 (3): 139-41, 1996.9208533
Wei Z: Clinical observation on therapeutic effect of acupuncture at zusanli for leukopenia. J Tradit Chin Med 18 (2): 94-5, 1998.10437222
Ye F, Chen S, Liu W: Effects of electro-acupuncture on immune function after chemotherapy in 28 cases. J Tradit Chin Med 22 (1): 21-3, 2002.11977512
Dang W, Yang J: Clinical study on acupuncture treatment of stomach carcinoma pain. J Tradit Chin Med 18 (1): 31-8, 1998.10437260
Alimi D, Rubino C, Pichard-Léandri E, et al.: Analgesic effect of auricular acupuncture for cancer pain: a randomized, blinded, controlled trial. J Clin Oncol 21 (22): 4120-6, 2003.14615440
Lu W, Rosenthal DS: Oncology Acupuncture for Chronic Pain in Cancer Survivors: A Reflection on the American Society of Clinical Oncology Chronic Pain Guideline. Hematol Oncol Clin North Am 32 (3): 519-533, 2018.29729786
Deng G, Bao T, Mao JJ: Understanding the Benefits of Acupuncture Treatment for Cancer Pain Management. Oncology (Williston Park) 32 (6): 310-6, 2018.29940063
Niemtzow RC: Integration of complementary disciplines into the oncology clinic. Part I. Acupuncture. Curr Probl Cancer 24 (4): 184-93, 2000 Jul-Aug.11001324
Alimi D, Rubino C, Leandri EP, et al.: Analgesic effects of auricular acupuncture for cancer pain. J Pain Symptom Manage 19 (2): 81-2, 2000.10766574
Filshie J, Redman D: Acupuncture and malignant pain problems. Eur J Surg Oncol 11 (4): 389-94, 1985.4065352
Wen HL: Cancer pain treated with acupuncture and electrical stimulation. Mod Med Asia 13 (2): 12-6, 1977.
Paley CA, Johnson MI, Tashani OA, et al.: Acupuncture for cancer pain in adults. Cochrane Database Syst Rev (10): CD007753, 2015.26468973
Hu C, Zhang H, Wu W, et al.: Acupuncture for Pain Management in Cancer: A Systematic Review and Meta-Analysis. Evid Based Complement Alternat Med 2016: 1720239, 2016.26977172
Xu LP, Yang SL, Su SQ, et al.: Effect of wrist-ankle acupuncture therapy combined with auricular acupuncture on cancer pain: A four-parallel arm randomized controlled trial. Complement Ther Clin Pract 39: 101170, 2020.32379695
Deng G, Rusch V, Vickers A, et al.: Randomized controlled trial of a special acupuncture technique for pain after thoracotomy. J Thorac Cardiovasc Surg 136 (6): 1464-9, 2008.19114190
Mehling WE, Jacobs B, Acree M, et al.: Symptom management with massage and acupuncture in postoperative cancer patients: a randomized controlled trial. J Pain Symptom Manage 33 (3): 258-66, 2007.17349495
Pfister DG, Cassileth BR, Deng GE, et al.: Acupuncture for pain and dysfunction after neck dissection: results of a randomized controlled trial. J Clin Oncol 28 (15): 2565-70, 2010.20406930
He JP, Friedrich M, Ertan AK, et al.: Pain-relief and movement improvement by acupuncture after ablation and axillary lymphadenectomy in patients with mammary cancer. Clin Exp Obstet Gynecol 26 (2): 81-4, 1999.10459443
Bao T, Ye X, Skinner J, et al.: The analgesic effect of magnetic acupressure in cancer patients undergoing bone marrow aspiration and biopsy: a randomized, blinded, controlled trial. J Pain Symptom Manage 41 (6): 995-1002, 2011.21306863
Sharifi Rizi M, Shamsalinia A, Ghaffari F, et al.: The effect of acupressure on pain, anxiety, and the physiological indexes of patients with cancer undergoing bone marrow biopsy. Complement Ther Clin Pract 29: 136-141, 2017.29122251
Vickers AJ, Cronin AM, Maschino AC, et al.: Acupuncture for chronic pain: individual patient data meta-analysis. Arch Intern Med 172 (19): 1444-53, 2012.22965186
Chien TJ, Liu CY, Chang YF, et al.: Acupuncture for treating aromatase inhibitor-related arthralgia in breast cancer: a systematic review and meta-analysis. J Altern Complement Med 21 (5): 251-60, 2015.25915433
Bae K, Yoo HS, Lamoury G, et al.: Acupuncture for Aromatase Inhibitor-Induced Arthralgia: A Systematic Review. Integr Cancer Ther 14 (6): 496-502, 2015.26220605
Chen L, Lin CC, Huang TW, et al.: Effect of acupuncture on aromatase inhibitor-induced arthralgia in patients with breast cancer: A meta-analysis of randomized controlled trials. Breast 33: 132-138, 2017.28384564
Crew KD, Capodice JL, Greenlee H, et al.: Randomized, blinded, sham-controlled trial of acupuncture for the management of aromatase inhibitor-associated joint symptoms in women with early-stage breast cancer. J Clin Oncol 28 (7): 1154-60, 2010.20100963
Bao T, Cai L, Giles JT, et al.: A dual-center randomized controlled double blind trial assessing the effect of acupuncture in reducing musculoskeletal symptoms in breast cancer patients taking aromatase inhibitors. Breast Cancer Res Treat 138 (1): 167-74, 2013.23393007
Oh B, Kimble B, Costa DS, et al.: Acupuncture for treatment of arthralgia secondary to aromatase inhibitor therapy in women with early breast cancer: pilot study. Acupunct Med 31 (3): 264-71, 2013.23722951
Mao JJ, Xie SX, Farrar JT, et al.: A randomised trial of electro-acupuncture for arthralgia related to aromatase inhibitor use. Eur J Cancer 50 (2): 267-76, 2014.24210070
Hershman DL, Unger JM, Greenlee H, et al.: Effect of Acupuncture vs Sham Acupuncture or Waitlist Control on Joint Pain Related to Aromatase Inhibitors Among Women With Early-Stage Breast Cancer: A Randomized Clinical Trial. JAMA 320 (2): 167-176, 2018.29998338
Mao JJ, Liou KT, Baser RE, et al.: Effectiveness of Electroacupuncture or Auricular Acupuncture vs Usual Care for Chronic Musculoskeletal Pain Among Cancer Survivors: The PEACE Randomized Clinical Trial. JAMA Oncol 7 (5): 720-727, 2021.33734288
Garcia MK, McQuade J, Haddad R, et al.: Systematic review of acupuncture in cancer care: a synthesis of the evidence. J Clin Oncol 31 (7): 952-60, 2013.23341529
Ezzo J, Vickers A, Richardson MA, et al.: Acupuncture-point stimulation for chemotherapy-induced nausea and vomiting. J Clin Oncol 23 (28): 7188-98, 2005.16192603
Dundee JW, Ghaly RG, Fitzpatrick KT, et al.: Acupuncture to prevent cisplatin-associated vomiting. Lancet 1 (8541): 1083, 1987.2883410
Roscoe JA, Morrow GR, Hickok JT, et al.: The efficacy of acupressure and acustimulation wrist bands for the relief of chemotherapy-induced nausea and vomiting. A University of Rochester Cancer Center Community Clinical Oncology Program multicenter study. J Pain Symptom Manage 26 (2): 731-42, 2003.12906958 22788994
Vickers AJ: Can acupuncture have specific effects on health? A systematic review of acupuncture antiemesis trials. J R Soc Med 89 (6): 303-11, 1996.8758186
Lee A, Done ML: The use of nonpharmacologic techniques to prevent postoperative nausea and vomiting: a meta-analysis. Anesth Analg 88 (6): 1362-9, 1999.10357346
Park J, Linde K, Manheimer E, et al.: The status and future of acupuncture clinical research. J Altern Complement Med 14 (7): 871-81, 2008.18803496
Ezzo J, Streitberger K, Schneider A: Cochrane systematic reviews examine P6 acupuncture-point stimulation for nausea and vomiting. J Altern Complement Med 12 (5): 489-95, 2006.16813514
Ezzo JM, Richardson MA, Vickers A, et al.: Acupuncture-point stimulation for chemotherapy-induced nausea or vomiting. Cochrane Database Syst Rev (2): CD002285, 2006.16625560
NIH Consensus Conference. Acupuncture. JAMA 280 (17): 1518-24, 1998.9809733
Dundee JW, Ghaly RG, Fitzpatrick KT, et al.: Acupuncture prophylaxis of cancer chemotherapy-induced sickness. J R Soc Med 82 (5): 268-71, 1989.2666662
Dundee JW, McMillan CM: Clinical uses of P6 acupuncture antiemesis. Acupunct Electrother Res 15 (3-4): 211-5, 1990.1982043
Dundee JW, Yang J, McMillan C: Non-invasive stimulation of the P6 (Neiguan) antiemetic acupuncture point in cancer chemotherapy. J R Soc Med 84 (4): 210-2, 1991.2027146
McMillan C, Dundee JW, Abram WP: Enhancement of the antiemetic action of ondansetron by transcutaneous electrical stimulation of the P6 antiemetic point, in patients having highly emetic cytotoxic drugs. Br J Cancer 64 (5): 971-2, 1991.1834156
Shen Y, Liu L, Chiang JS, et al.: Randomized, placebo-controlled trial of K1 acupoint acustimulation to prevent cisplatin-induced or oxaliplatin-induced nausea. Cancer 121 (1): 84-92, 2015.25204437
Xie J, Chen LH, Ning ZY, et al.: Effect of transcutaneous electrical acupoint stimulation combined with palonosetron on chemotherapy-induced nausea and vomiting: a single-blind, randomized, controlled trial. Chin J Cancer 36 (1): 6, 2017.28069044
Eghbali M, Yekaninejad MS, Varaei S, et al.: The effect of auricular acupressure on nausea and vomiting caused by chemotherapy among breast cancer patients. Complement Ther Clin Pract 24: 189-94, 2016.27502820
Peoples AR, Culakova E, Heckler CE, et al.: Positive effects of acupressure bands combined with relaxation music/instructions on patients most at risk for chemotherapy-induced nausea. Support Care Cancer 27 (12): 4597-4605, 2019.30929028
Deng G, Giralt S, Chung DJ, et al.: Acupuncture for reduction of symptom burden in multiple myeloma patients undergoing autologous hematopoietic stem cell transplantation: a randomized sham-controlled trial. Support Care Cancer 26 (2): 657-665, 2018.28920142
Li QW, Yu MW, Wang XM, et al.: Efficacy of acupuncture in the prevention and treatment of chemotherapy-induced nausea and vomiting in patients with advanced cancer: a multi-center, single-blind, randomized, sham-controlled clinical research. Chin Med 15: 57, 2020.32514290
Enblom A, Lekander M, Hammar M, et al.: Getting the grip on nonspecific treatment effects: emesis in patients randomized to acupuncture or sham compared to patients receiving standard care. PLoS One 6 (3): e14766, 2011.21448267
Shen J, Wenger N, Glaspy J, et al.: Electroacupuncture for control of myeloablative chemotherapy-induced emesis: A randomized controlled trial. JAMA 284 (21): 2755-61, 2000.11105182 20558506
Streitberger K, Friedrich-Rust M, Bardenheuer H, et al.: Effect of acupuncture compared with placebo-acupuncture at P6 as additional antiemetic prophylaxis in high-dose chemotherapy and autologous peripheral blood stem cell transplantation: a randomized controlled single-blind trial. Clin Cancer Res 9 (7): 2538-44, 2003.12855628
You Q, Yu H, Wu D, et al.: Vitamin B6 points PC6 injection during acupuncture can relieve nausea and vomiting in patients with ovarian cancer. Int J Gynecol Cancer 19 (4): 567-71, 2009.19509551
Price H, Lewith G, Williams C: Acupressure as an antiemetic in cancer chemotherapy. Complementary Medical Research 5 (2): 93-4, 1991.
Molassiotis A, Helin AM, Dabbour R, et al.: The effects of P6 acupressure in the prophylaxis of chemotherapy-related nausea and vomiting in breast cancer patients. Complement Ther Med 15 (1): 3-12, 2007.17352966
Dibble SL, Luce J, Cooper BA, et al.: Acupressure for chemotherapy-induced nausea and vomiting: a randomized clinical trial. Oncol Nurs Forum 34 (4): 813-20, 2007.17723973
Deng G, Vickers A, Yeung S, et al.: Randomized, controlled trial of acupuncture for the treatment of hot flashes in breast cancer patients. J Clin Oncol 25 (35): 5584-90, 2007.18065731
Porzio G, Trapasso T, Martelli S, et al.: Acupuncture in the treatment of menopause-related symptoms in women taking tamoxifen. Tumori 88 (2): 128-30, 2002 Mar-Apr.12088252
Walker EM, Rodriguez AI, Kohn B, et al.: Acupuncture versus venlafaxine for the management of vasomotor symptoms in patients with hormone receptor-positive breast cancer: a randomized controlled trial. J Clin Oncol 28 (4): 634-40, 2010.20038728
Beer TM, Benavides M, Emmons SL, et al.: Acupuncture for hot flashes in patients with prostate cancer. Urology 76 (5): 1182-8, 2010.20494414
Nedstrand E, Wyon Y, Hammar M, et al.: Psychological well-being improves in women with breast cancer after treatment with applied relaxation or electro-acupuncture for vasomotor symptom. J Psychosom Obstet Gynaecol 27 (4): 193-9, 2006.17225620
Frisk J, Spetz AC, Hjertberg H, et al.: Two modes of acupuncture as a treatment for hot flushes in men with prostate cancer--a prospective multicenter study with long-term follow-up. Eur Urol 55 (1): 156-63, 2009.18294761
Ashamalla H, Jiang ML, Guirguis A, et al.: Acupuncture for the alleviation of hot flashes in men treated with androgen ablation therapy. Int J Radiat Oncol Biol Phys 79 (5): 1358-63, 2011.20605360
Hervik J, Mjåland O: Acupuncture for the treatment of hot flashes in breast cancer patients, a randomized, controlled trial. Breast Cancer Res Treat 116 (2): 311-6, 2009.18839306
Frisk J, Carlhäll S, Källström AC, et al.: Long-term follow-up of acupuncture and hormone therapy on hot flushes in women with breast cancer: a prospective, randomized, controlled multicenter trial. Climacteric 11 (2): 166-74, 2008.18365859
Bokmand S, Flyger H: Acupuncture relieves menopausal discomfort in breast cancer patients: a prospective, double blinded, randomized study. Breast 22 (3): 320-3, 2013.22906948
Bao T, Cai L, Snyder C, et al.: Patient-reported outcomes in women with breast cancer enrolled in a dual-center, double-blind, randomized controlled trial assessing the effect of acupuncture in reducing aromatase inhibitor-induced musculoskeletal symptoms. Cancer 120 (3): 381-9, 2014.24375332
Garcia MK, Graham-Getty L, Haddad R, et al.: Systematic review of acupuncture to control hot flashes in cancer patients. Cancer 121 (22): 3948-58, 2015.26281028
Salehi A, Marzban M, Zadeh AR: Acupuncture for treating hot flashes in breast cancer patients: an updated meta-analysis. Support Care Cancer 24 (12): 4895-4899, 2016.27497608
Chen YP, Liu T, Peng YY, et al.: Acupuncture for hot flashes in women with breast cancer: A systematic review. J Cancer Res Ther 12 (2): 535-42, 2016 Apr-Jun.27461606
Mao JJ, Bowman MA, Xie SX, et al.: Electroacupuncture Versus Gabapentin for Hot Flashes Among Breast Cancer Survivors: A Randomized Placebo-Controlled Trial. J Clin Oncol 33 (31): 3615-20, 2015.26304905
Lesi G, Razzini G, Musti MA, et al.: Acupuncture As an Integrative Approach for the Treatment of Hot Flashes in Women With Breast Cancer: A Prospective Multicenter Randomized Controlled Trial (AcCliMaT). J Clin Oncol 34 (15): 1795-802, 2016.27022113
Molassiotis A, Sylt P, Diggins H: The management of cancer-related fatigue after chemotherapy with acupuncture and acupressure: a randomised controlled trial. Complement Ther Med 15 (4): 228-37, 2007.18054724
Cheng CS, Chen LY, Ning ZY, et al.: Acupuncture for cancer-related fatigue in lung cancer patients: a randomized, double blind, placebo-controlled pilot trial. Support Care Cancer 25 (12): 3807-3814, 2017.28707168
Molassiotis A, Bardy J, Finnegan-John J, et al.: Acupuncture for cancer-related fatigue in patients with breast cancer: a pragmatic randomized controlled trial. J Clin Oncol 30 (36): 4470-6, 2012.23109700
Molassiotis A, Bardy J, Finnegan-John J, et al.: A randomized, controlled trial of acupuncture self-needling as maintenance therapy for cancer-related fatigue after therapist-delivered acupuncture. Ann Oncol 24 (6): 1645-52, 2013.23436910
Balk J, Day R, Rosenzweig M, et al.: Pilot, randomized, modified, double-blind, placebo-controlled trial of acupuncture for cancer-related fatigue. J Soc Integr Oncol 7 (1): 4-11, 2009.19476729
Deng G, Chan Y, Sjoberg D, et al.: Acupuncture for the treatment of post-chemotherapy chronic fatigue: a randomized, blinded, sham-controlled trial. Support Care Cancer 21 (6): 1735-41, 2013.23334562
Smith C, Carmady B, Thornton C, et al.: The effect of acupuncture on post-cancer fatigue and well-being for women recovering from breast cancer: a pilot randomised controlled trial. Acupunct Med 31 (1): 9-15, 2013.23196311
Mao H, Mao JJ, Guo M, et al.: Effects of infrared laser moxibustion on cancer-related fatigue: A randomized, double-blind, placebo-controlled trial. Cancer 122 (23): 3667-3672, 2016.27495269
Zick SM, Sen A, Wyatt GK, et al.: Investigation of 2 Types of Self-administered Acupressure for Persistent Cancer-Related Fatigue in Breast Cancer Survivors: A Randomized Clinical Trial. JAMA Oncol 2 (11): 1470-1476, 2016.27388752
Zick SM, Sen A, Hassett AL, et al.: Impact of Self-Acupressure on Co-Occurring Symptoms in Cancer Survivors. JNCI Cancer Spectr 2 (4): pky064, 2018.30687806
Mao JJ, Farrar JT, Bruner D, et al.: Electroacupuncture for fatigue, sleep, and psychological distress in breast cancer patients with aromatase inhibitor-related arthralgia: a randomized trial. Cancer 120 (23): 3744-51, 2014.25077452
Johnston MF, Hays RD, Subramanian SK, et al.: Patient education integrated with acupuncture for relief of cancer-related fatigue randomized controlled feasibility study. BMC Complement Altern Med 11: 49, 2011.21703001
Meng Z, Garcia MK, Hu C, et al.: Randomized controlled trial of acupuncture for prevention of radiation-induced xerostomia among patients with nasopharyngeal carcinoma. Cancer 118 (13): 3337-44, 2012.22072272
Braga FP, Lemos Junior CA, Alves FA, et al.: Acupuncture for the prevention of radiation-induced xerostomia in patients with head and neck cancer. Braz Oral Res 25 (2): 180-5, 2011 Mar-Apr.21537645
Simcock R, Fallowfield L, Monson K, et al.: ARIX: a randomised trial of acupuncture v oral care sessions in patients with chronic xerostomia following treatment of head and neck cancer. Ann Oncol 24 (3): 776-83, 2013.23104718
Meng Z, Kay Garcia M, Hu C, et al.: Sham-controlled, randomised, feasibility trial of acupuncture for prevention of radiation-induced xerostomia among patients with nasopharyngeal carcinoma. Eur J Cancer 48 (11): 1692-9, 2012.22285177
Blom M, Lundeberg T: Long-term follow-up of patients treated with acupuncture for xerostomia and the influence of additional treatment. Oral Dis 6 (1): 15-24, 2000.10673783
Garcia MK, Meng Z, Rosenthal DI, et al.: Effect of True and Sham Acupuncture on Radiation-Induced Xerostomia Among Patients With Head and Neck Cancer: A Randomized Clinical Trial. JAMA Netw Open 2 (12): e1916910, 2019.31808921
Bao T, Basal C, Seluzicki C, et al.: Long-term chemotherapy-induced peripheral neuropathy among breast cancer survivors: prevalence, risk factors, and fall risk. Breast Cancer Res Treat 159 (2): 327-33, 2016.27510185
Wong R, Sagar S: Acupuncture treatment for chemotherapy-induced peripheral neuropathy--a case series. Acupunct Med 24 (2): 87-91, 2006.16783284
Schroeder S, Meyer-Hamme G, Epplée S: Acupuncture for chemotherapy-induced peripheral neuropathy (CIPN): a pilot study using neurography. Acupunct Med 30 (1): 4-7, 2012.22146780
Ben-Arye E, Hausner D, Samuels N, et al.: Impact of acupuncture and integrative therapies on chemotherapy-induced peripheral neuropathy: A multicentered, randomized controlled trial. Cancer 128 (20): 3641-3652, 2022.35960141
Bao T, Patil S, Chen C, et al.: Effect of Acupuncture vs Sham Procedure on Chemotherapy-Induced Peripheral Neuropathy Symptoms: A Randomized Clinical Trial. JAMA Netw Open 3 (3): e200681, 2020.32159808
Bao T, Baser R, Chen C, et al.: Health-Related Quality of Life in Cancer Survivors with Chemotherapy-Induced Peripheral Neuropathy: A Randomized Clinical Trial. Oncologist 26 (11): e2070-e2078, 2021.34390283
Chan K, Lui L, Yu K, et al.: The efficacy and safety of electro-acupuncture for alleviating chemotherapy-induced peripheral neuropathy in patients with coloreactal cancer: study protocol for a single-blinded, randomized sham-controlled trial. Trials 21 (1): 58, 2020.31918748
D'Alessandro EG, Nebuloni Nagy DR, de Brito CMM, et al.: Acupuncture for chemotherapy-induced peripheral neuropathy: a randomised controlled pilot study. BMJ Support Palliat Care 12 (1): 64-72, 2022.31256014
Jeong YJ, Kwak MA, Seo JC, et al.: Acupuncture for the Treatment of Taxane-Induced Peripheral Neuropathy in Breast Cancer Patients: A Pilot Trial. Evid Based Complement Alternat Med 2018: 5367014, 2018.30420895
Bao T, Goloubeva O, Pelser C, et al.: A pilot study of acupuncture in treating bortezomib-induced peripheral neuropathy in patients with multiple myeloma. Integr Cancer Ther 13 (5): 396-404, 2014.24867959
Garcia MK, Cohen L, Guo Y, et al.: Electroacupuncture for thalidomide/bortezomib-induced peripheral neuropathy in multiple myeloma: a feasibility study. J Hematol Oncol 7: 41, 2014.24886772
Bao T, Seidman AD, Piulson L, et al.: A phase IIA trial of acupuncture to reduce chemotherapy-induced peripheral neuropathy severity during neoadjuvant or adjuvant weekly paclitaxel chemotherapy in breast cancer patients. Eur J Cancer 101: 12-19, 2018.30007894
Greenlee H, Crew KD, Capodice J, et al.: Randomized sham-controlled pilot trial of weekly electro-acupuncture for the prevention of taxane-induced peripheral neuropathy in women with early stage breast cancer. Breast Cancer Res Treat 156 (3): 453-464, 2016.27013473
Chien TJ, Liu CY, Fang CJ, et al.: The Efficacy of Acupuncture in Chemotherapy-Induced Peripheral Neuropathy: Systematic Review and Meta-Analysis. Integr Cancer Ther 18: 1534735419886662, 2019 Jan-Dec.31833790
Li K, Giustini D, Seely D: A systematic review of acupuncture for chemotherapy-induced peripheral neuropathy. Curr Oncol 26 (2): e147-e154, 2019.31043820
Han X, Wang L, Shi H, et al.: Acupuncture combined with methylcobalamin for the treatment of chemotherapy-induced peripheral neuropathy in patients with multiple myeloma. BMC Cancer 17 (1): 40, 2017.28068938
Rostock M, Jaroslawski K, Guethlin C, et al.: Chemotherapy-induced peripheral neuropathy in cancer patients: a four-arm randomized trial on the effectiveness of electroacupuncture. Evid Based Complement Alternat Med 2013: 349653, 2013.24066010
Lu W, Giobbie-Hurder A, Freedman RA, et al.: Acupuncture for Chemotherapy-Induced Peripheral Neuropathy in Breast Cancer Survivors: A Randomized Controlled Pilot Trial. Oncologist 25 (4): 310-318, 2020.32297442
Schröder S, Liepert J, Remppis A, et al.: Acupuncture treatment improves nerve conduction in peripheral neuropathy. Eur J Neurol 14 (3): 276-81, 2007.17355547
Kanakura Y, Niwa K, Kometani K, et al.: Effectiveness of acupuncture and moxibustion treatment for lymphedema following intrapelvic lymph node dissection: a preliminary report. Am J Chin Med 30 (1): 37-43, 2002.12067095
Alem M, Gurgel MS: Acupuncture in the rehabilitation of women after breast cancer surgery--a case series. Acupunct Med 26 (2): 87-93, 2008.18591908
Cassileth BR, Van Zee KJ, Chan Y, et al.: A safety and efficacy pilot study of acupuncture for the treatment of chronic lymphoedema. Acupunct Med 29 (3): 170-2, 2011.21685498
Cassileth BR, Van Zee KJ, Yeung KS, et al.: Acupuncture in the treatment of upper-limb lymphedema: results of a pilot study. Cancer 119 (13): 2455-61, 2013.23576267
de Valois B, Asprey A, Young T: "The Monkey on Your Shoulder": A Qualitative Study of Lymphoedema Patients' Attitudes to and Experiences of Acupuncture and Moxibustion. Evid Based Complement Alternat Med 2016: 4298420, 2016.27630734
Smith CA, Pirotta M, Kilbreath S: A feasibility study to examine the role of acupuncture to reduce symptoms of lymphoedema after breast cancer: a randomised controlled trial. Acupunct Med 32 (5): 387-93, 2014.24990160
Yao C, Xu Y, Chen L, et al.: Effects of warm acupuncture on breast cancer-related chronic lymphedema: a randomized controlled trial. Curr Oncol 23 (1): e27-34, 2016.26966410
Bao T, Iris Zhi W, Vertosick EA, et al.: Acupuncture for breast cancer-related lymphedema: a randomized controlled trial. Breast Cancer Res Treat 170 (1): 77-87, 2018.29520533
Meng ZQ, Garcia MK, Chiang JS, et al.: Electro-acupuncture to prevent prolonged postoperative ileus: a randomized clinical trial. World J Gastroenterol 16 (1): 104-11, 2010.20039456
Deng G, Wong WD, Guillem J, et al.: A phase II, randomized, controlled trial of acupuncture for reduction of Postcolectomy Ileus. Ann Surg Oncol 20 (4): 1164-9, 2013.23188543
Ng SS, Leung WW, Mak TW, et al.: Electroacupuncture reduces duration of postoperative ileus after laparoscopic surgery for colorectal cancer. Gastroenterology 144 (2): 307-313.e1, 2013.23142625
Liu YH, Dong GT, Ye Y, et al.: Effectiveness of Acupuncture for Early Recovery of Bowel Function in Cancer: A Systematic Review and Meta-Analysis. Evid Based Complement Alternat Med 2017: 2504021, 2017.29422935
Wang Y, Yang JW, Yan SY, et al.: Electroacupuncture vs Sham Electroacupuncture in the Treatment of Postoperative Ileus After Laparoscopic Surgery for Colorectal Cancer: A Multicenter, Randomized Clinical Trial. JAMA Surg 158 (1): 20-27, 2023.36322060
Tong QY, Liu R, Gao Y, et al.: Effect of Electroacupuncture Based on ERAS for Preoperative Anxiety in Breast Cancer Surgery: A Single-Center, Randomized, Controlled Trial. Clin Breast Cancer 22 (7): 724-736, 2022.35739000
Feng Y, Wang XY, Li SD, et al.: Clinical research of acupuncture on malignant tumor patients for improving depression and sleep quality. J Tradit Chin Med 31 (3): 199-202, 2011.21977863
Garland SN, Xie SX, DuHamel K, et al.: Acupuncture Versus Cognitive Behavioral Therapy for Insomnia in Cancer Survivors: A Randomized Clinical Trial. J Natl Cancer Inst 111 (12): 1323-1331, 2019.31081899
Yang M, Liou KT, Garland SN, et al.: Acupuncture versus cognitive behavioral therapy for pain among cancer survivors with insomnia: an exploratory analysis of a randomized clinical trial. NPJ Breast Cancer 7 (1): 148, 2021.34848737
Tong T, Pei C, Chen J, et al.: Efficacy of Acupuncture Therapy for Chemotherapy-Related Cognitive Impairment in Breast Cancer Patients. Med Sci Monit 24: 2919-2927, 2018.29735975
Zhang ZJ, Man SC, Yam LL, et al.: Electroacupuncture trigeminal nerve stimulation plus body acupuncture for chemotherapy-induced cognitive impairment in breast cancer patients: An assessor-participant blinded, randomized controlled trial. Brain Behav Immun 88: 88-96, 2020.32305573
Liou KT, Root JC, Garland SN, et al.: Effects of acupuncture versus cognitive behavioral therapy on cognitive function in cancer survivors with insomnia: A secondary analysis of a randomized clinical trial. Cancer 126 (13): 3042-3052, 2020.32320061
Yildirim D, Kocatepe V, Talu GK: The efficacy of acupressure in managing opioid-induced constipation in patients with cancer: A single-blind randomized controlled trial. Support Care Cancer 30 (6): 5201-5210, 2022.35257230
Xia YQ, Zhang D, Yang CX, et al.: An approach to the effect on tumors of acupuncture in combination with radiotherapy or chemotherapy. J Tradit Chin Med 6 (1): 23-6, 1986.3016416
Johnstone PA, Polston GR, Niemtzow RC, et al.: Integration of acupuncture into the oncology clinic. Palliat Med 16 (3): 235-9, 2002.12047000
Zhang ZH: Effect of acupuncture on 44 cases of radiation rectitis following radiation therapy for carcinoma of the cervix uteri. J Tradit Chin Med 7 (2): 139-40, 1987.3448396
Yao W: Prof. Sheng Canruo's experience in acupuncture treatment of throat diseases with yan si xue. J Tradit Chin Med 20 (2): 122-5, 2000.11039000
Feng RZ: Relief of oesophageal carcinomatous obstruction by acupuncture. J Tradit Chin Med 4 (1): 3-4, 1984.6565880
Ge AX, Ryan ME, Giaccone G, et al.: Acupuncture treatment for persistent hiccups in patients with cancer. J Altern Complement Med 16 (7): 811-6, 2010.20575702
de Valois BA, Young TE, Melsome E: Assessing the feasibility of using acupuncture and moxibustion to improve quality of life for cancer survivors with upper body lymphoedema. Eur J Oncol Nurs 16 (3): 301-9, 2012.21917515
Bettini E, Idiokitas R, Mahmood L, et al.: Safety and Acceptance of Acupuncture and Acupressure in Children, Adolescents, and Young Adults Undergoing Hematopoietic Stem Cell Transplant. Cancer Nurs 46 (3): E204-E207, 2023 May-Jun 01.35679148
Dupuis LL, Kelly KM, Krischer JP, et al.: Acupressure bands do not improve chemotherapy-induced nausea control in pediatric patients receiving highly emetogenic chemotherapy: A single-blinded, randomized controlled trial. Cancer 124 (6): 1188-1196, 2018.29266260
Lown EA, Banerjee A, Vittinghoff E, et al.: Acupressure to Reduce Treatment-Related Symptoms for Children With Cancer and Recipients of Hematopoietic Stem Cell Transplant: Protocol for a Randomized Controlled Trial. Glob Adv Health Med 8: 2164956119870444, 2019.31453017
Jindal V, Ge A, Mansky PJ: Safety and efficacy of acupuncture in children: a review of the evidence. J Pediatr Hematol Oncol 30 (6): 431-42, 2008.18525459
Ladas EJ, Rooney D, Taromina K, et al.: The safety of acupuncture in children and adolescents with cancer therapy-related thrombocytopenia. Support Care Cancer 18 (11): 1487-90, 2010.20556436
Chokshi SK, Ladas EJ, Taromina K, et al.: Predictors of acupuncture use among children and adolescents with cancer. Pediatr Blood Cancer 64 (7): , 2017.28176457

## Adverse Effects

Serious adverse effects of acupuncture are rare. Reported accidents and infections appear to be related to violations of sterile procedure, negligence of the practitioner, or both.[1,2] A systematic review of case reports on the safety of acupuncture, involving 98 papers published in the English language from 22 countries during the period from 1965 to 1999, found only 202 incidents. The number of incidents appeared to decline as training standards and licensure requirements were enhanced. Among the 118 (60%) reported incidents involving infection, 94 (80%) involved hepatitis, occurring mainly in the late 1970s and early 1980s. Very few hepatitis or other infections associated with acupuncture have been reported since 1988, when widespread use of disposable needles was introduced and national certification requirements for clean-needle techniques were developed and enforced as an acupuncture licensure requirement.[3,4] Because cancer patients who are undergoing chemotherapy or radiation therapy are immunocompromised, precautions must be taken and strict clean-needle techniques must be applied when acupuncture treatment is given.[5]

Minor adverse effects of acupuncture such as the following, have been reported:

- Pain at needling sites.
- Hematoma.
- Tiredness.
- Lightheadedness.
- Drowsiness.
- Localized skin irritation.

These minor adverse effects can be minimized by appropriate patient management, including local pressing and massage at the needling site after treatment.[6,7]

### References

Lao L: Acupuncture techniques and devices. J Altern Complement Med 2 (1): 23-5, 1996.9395637
MacPherson H: Fatal and adverse events from acupuncture: allegation, evidence, and the implications. J Altern Complement Med 5 (1): 47-56, 1999.10100030
Lao L, Zhang G, Wong RH, et al.: The effect of electroacupuncture as an adjunct on cyclophosphamide-induced emesis in ferrets. Pharmacol Biochem Behav 74 (3): 691-9, 2003.12543236
National Acupuncture Foundation: Clean Needle Technique Manual for Acupuncturists: Guidelines and Standards for the Clean and Safe Clinical Practice of Acupuncture. 6th ed. National Acupuncture Foundation, 2009.
Shen J, Wenger N, Glaspy J, et al.: Electroacupuncture for control of myeloablative chemotherapy-induced emesis: A randomized controlled trial. JAMA 284 (21): 2755-61, 2000.11105182 20558506
Cheng X: Chinese Acupuncture and Moxibustion. 3rd ed. Foreign Languages Press, 2018.
O'Connor J, Bensky D, eds.: Acupuncture: A Comprehensive Text. Eastland Press, 1981.

## Summary of the Evidence for Acupuncture Treatment of Cancer-Related Symptoms

To assist readers in evaluating the results of human studies of integrative, alternative, and complementary therapies for cancer, the strength of the evidence (i.e., the levels of evidence) associated with each type of treatment is provided whenever possible. To qualify for a level of evidence analysis, a study must:

- Be published in a peer-reviewed scientific journal.
- Report on a therapeutic outcome or outcomes, such as tumor response, improvement in survival, or measured improvement in quality of life.
- Describe clinical findings in sufficient detail that a meaningful evaluation can be made.

Separate levels of evidence scores are assigned to qualifying human studies on the basis of statistical strength of the study design and scientific strength of the treatment outcomes (i.e., endpoints) measured. The resulting two scores are then combined to produce an overall score. For an explanation of the scores and additional information about levels of evidence analysis, see the Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

It is noteworthy that almost all reported clinical studies on the effects of acupuncture on cancer or cancer therapy–related symptoms focus on symptom management rather than the disease itself. Investigations into the effects of acupuncture on chemotherapy-induced nausea and vomiting, many of which were randomized and well-controlled, produced the most convincing findings. A number of randomized controlled trials have reported on the effect of acupuncture in alleviating other cancer treatment-associated side effects, with many showing promising evidence supporting the use of acupuncture. Additional phase III clinical trials are ongoing.

## Latest Updates to This Summary (11/01/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of acupuncture in the treatment of people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Integrative, Alternative, and Complementary Therapies Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Acupuncture. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/hp/acupuncture-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389159]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).